# Von Hippel-Lindau Disease (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the genetics of von Hippel-Lindau disease (VHL). It is intended as a resource to inform and assist clinicians who care for VHL patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Introduction

Von Hippel-Lindau disease (VHL) is an autosomal dominant disease that can predispose individuals to multiple neoplasms. Germline pathogenic variants in the VHL gene predispose individuals to specific types of benign tumors, malignant tumors, and cysts in many organ systems. These tumors and cysts include central nervous system hemangioblastomas; retinal hemangioblastomas; clear cell renal cell carcinomas and renal cysts; pheochromocytomas, cysts, cystadenomas, and neuroendocrine tumors of the pancreas; endolymphatic sac tumors; and cystadenomas of the epididymis (males) and of the broad ligament (females).[1-4] A multidisciplinary approach is required for the evaluation, and in some cases, the management of individuals with VHL. A case manager or nurse navigator may be helpful in certain scenarios.[5] Specialists who care for individuals with VHL may include urologic oncology surgeons, neurosurgeons, general surgeons, ophthalmologists, endocrinologists, neurologists, medical oncologists, genetic counselors, and medical geneticists. The significant burden of VHL leads to challenges, including high health care costs.[6]

### References

Choyke PL, Glenn GM, Walther MM, et al.: von Hippel-Lindau disease: genetic, clinical, and imaging features. Radiology 194 (3): 629-42, 1995.7862955
Lonser RR, Glenn GM, Walther M, et al.: von Hippel-Lindau disease. Lancet 361 (9374): 2059-67, 2003.12814730
Pithukpakorn M, Glenn G: von Hippel-Lindau syndrome. Community Oncology 1 (4): 232-43, 2004.
Glenn GM, Daniel LN, Choyke P, et al.: Von Hippel-Lindau (VHL) disease: distinct phenotypes suggest more than one mutant allele at the VHL locus. Hum Genet 87 (2): 207-10, 1991.2066108
Wolters WPG, Dreijerink KMA, Giles RH, et al.: Multidisciplinary integrated care pathway for von Hippel-Lindau disease. Cancer 128 (15): 2871-2879, 2022.35579632
Jonasch E, Song Y, Freimark J, et al.: Epidemiology and Economic Burden of von Hippel-Lindau Disease-Associated Renal Cell Carcinoma in the United States. Clin Genitourin Cancer 21 (2): 238-247, 2023.36682891

## Genetics

### VHL Gene

The VHL gene is a tumor suppressor gene located on the short arm of chromosome 3 at cytoband 3p25-26.[1] VHL pathogenic variants occur in all three exons of this gene. Most affected individuals inherit a VHL germline pathogenic variant from an affected parent and a normal (wild-type) copy of VHL from an unaffected parent. Von Hippel-Lindau disease (VHL)-associated tumors conform to Knudson’s “two-hit” hypothesis,[2,3] in which the clonal origin, or the first transformed cell of the tumor, occurs only after both VHL alleles are inactivated in a cell. The inherited germline pathogenic variant in VHL represents the first "hit," which is present in every cell in the body. The second “hit” is a somatic variant, which occurs in a specific tissue at some point after a person's birth. It damages the normal, or wild-type, VHL allele, creating a clonal neoplastic cell of origin, which may proliferate into a tumor mass.

#### Prevalence and rare founder effects

The incidence of VHL is estimated to be between 1 case per 27,000 and 1 case per 43,000 live births in the general population.[4-6] The prevalence is estimated to be between 1 in 31,000 to 1 in 91,000 individuals.[5-8] Precise quantification of this number is a challenge because it requires comprehensive screening of potentially at-risk blood relatives of individuals diagnosed with VHL. The large number of unique pathogenic variants in this small three-exon gene indicates that most family clusters have not arisen from a single founder.

#### Penetrance of pathogenic variants

VHL pathogenic variants are highly penetrant, with manifestations found in nearly 100% of carriers by age 65 years.[4,9] Almost all carriers develop one or more types of VHL-related neoplasms.

#### Risk factors for VHL

Each offspring of an individual with VHL has a 50% chance of inheriting the VHL pathogenic variant allele from their affected parent. For more information, see the Genetic Diagnosis in VHL section.

#### Genotype-phenotype correlations

Specific alterations in the VHL gene may help predict an individual’s risk of developing renal cell carcinoma (RCC) and other VHL-associated tumors. Classifying genotypes into different risk groups has been a goal to better inform screening for VHL disease manifestations. There have been efforts to subdivide patients based on familial variants. For example, in 1991, researchers classified VHL cases into two different types: type 1 VHL (VHL without pheochromocytomas [PHEOs]) and type 2 VHL (VHL with PHEOs).[7] Individuals with type 1 VHL often have large deletions in the VHL gene, whereas individuals with type 2 VHL often have missense variants in the VHL gene.[10,11] In 1995, type 2 VHL was further subdivided into type 2A VHL (VHL with PHEOs and a low risk for RCC) and type 2B VHL (VHL with PHEOs and RCC).[12] In 2001, type 2C VHL (VHL with isolated PHEOs but without hemangioblastoma or RCC) was also reported.[13] The following types of pathogenic variants can lead to VHL clinical manifestations: missense variants, nonsense variants, frameshift variants, insertions, partial/complete deletions, and splice-site variants. These can be further divided into truncating and nontruncating variants.

In recent years, there have been exceptions to these VHL classifications, suggesting that screening for all disease manifestations is warranted in all individuals with VHL.[11] Given the considerable overlap between VHL phenotypes, current surveillance guidelines do not incorporate an individual's genotype or clinical VHL subtype into screening recommendations.

#### De novo pathogenic variants and mosaicism

In some cases, an individual can be diagnosed with VHL, even when this disease is not present in other family members. This scenario can occur when an affected individual has a de novo (new) pathogenic variant in the VHL gene. Patients who were diagnosed with VHL and have no family history of VHL comprise about 23% of VHL kindreds.[14] A new variant is, by definition, a postzygotic event because it is not transmitted from a parent.

Depending on the embryogenesis stage at which the new variant occurs, there may be different somatic cell lineages carrying the variant. This influences the extent of mosaicism seen in the cell lineages. Mosaicism occurs when two or more cell lines in an individual differ by genotype. These differing cell lines all arise from the same zygote.[15] If the postzygotic de novo variant affects the gonadal cell line, there is a risk of transmitting a germline variant to offspring.[14]

#### Allelic disorder

VHL-associated polycythemia (also known as familial erythrocytosis type 2 or Chuvash polycythemia) is a rare, autosomal recessive blood disorder caused by homozygous or compound heterozygous pathogenic variants in VHL in which affected individuals develop abnormally high numbers of red blood cells (polycythemia). The affected individuals have biallelic pathogenic variants in the VHL gene. It had been originally thought that the typical VHL syndromic tumors do not occur in these affected individuals.[16-18]

### Other Genetic Alterations

In sporadic RCC, mutational inactivation of the VHL gene is the most frequent molecular event. In addition to VHL inactivation, sporadic clear cell renal cell carcinoma (ccRCC) tumors harbor frequent variants in other genes, including PBRM1, SETD2, and BAP1.[19,20] Mutational inactivation of PBRM1, SETD2, and BAP1 are “second hit” events that occur after VHL is altered in sporadic ccRCC. These events contribute to the development and growth of ccRCC.[21 ,20] Germline pathogenic variants in PBRM1 and BAP1 can result in hereditary forms of ccRCC.[22] The role of PBRM1, BAP1, and SETD2 in VHL-related ccRCC growth and progression is under investigation.

### References

Latif F, Tory K, Gnarra J, et al.: Identification of the von Hippel-Lindau disease tumor suppressor gene. Science 260 (5112): 1317-20, 1993.8493574
Knudson AG, Strong LC: Mutation and cancer: neuroblastoma and pheochromocytoma. Am J Hum Genet 24 (5): 514-32, 1972.4340974
Knudson AG: Genetics of human cancer. Annu Rev Genet 20: 231-51, 1986.2880556
Maher ER, Iselius L, Yates JR, et al.: Von Hippel-Lindau disease: a genetic study. J Med Genet 28 (7): 443-7, 1991.1895313
Binderup ML, Galanakis M, Budtz-Jørgensen E, et al.: Prevalence, birth incidence, and penetrance of von Hippel-Lindau disease (vHL) in Denmark. Eur J Hum Genet 25 (3): 301-307, 2017.27966541
Evans DG, Howard E, Giblin C, et al.: Birth incidence and prevalence of tumor-prone syndromes: estimates from a UK family genetic register service. Am J Med Genet A 152A (2): 327-32, 2010.20082463
Neumann HP, Wiestler OD: Clustering of features of von Hippel-Lindau syndrome: evidence for a complex genetic locus. Lancet 337 (8749): 1052-4, 1991.1673491
Poulsen ML, Budtz-Jørgensen E, Bisgaard ML: Surveillance in von Hippel-Lindau disease (vHL). Clin Genet 77 (1): 49-59, 2010.19863552
Zhang K, Qiu J, Yang W, et al.: Clinical characteristics and risk factors for survival in affected offspring of von Hippel-Lindau disease patients. J Med Genet 59 (10): 951-956, 2022.34916234
Reich M, Jaegle S, Neumann-Haefelin E, et al.: Genotype-phenotype correlation in von Hippel-Lindau disease. Acta Ophthalmol 99 (8): e1492-e1500, 2021.33720516
Salama Y, Albanyan S, Szybowska M, et al.: Comprehensive characterization of a Canadian cohort of von Hippel-Lindau disease patients. Clin Genet 96 (5): 461-467, 2019.31368132
Brauch H, Kishida T, Glavac D, et al.: Von Hippel-Lindau (VHL) disease with pheochromocytoma in the Black Forest region of Germany: evidence for a founder effect. Hum Genet 95 (5): 551-6, 1995.7759077
Hoffman MA, Ohh M, Yang H, et al.: von Hippel-Lindau protein mutants linked to type 2C VHL disease preserve the ability to downregulate HIF. Hum Mol Genet 10 (10): 1019-27, 2001.11331612
Sgambati MT, Stolle C, Choyke PL, et al.: Mosaicism in von Hippel-Lindau disease: lessons from kindreds with germline mutations identified in offspring with mosaic parents. Am J Hum Genet 66 (1): 84-91, 2000.10631138
Austin KD, Hall JG: Nontraditional inheritance. Pediatr Clin North Am 39 (2): 335-48, 1992.1553247
Ang SO, Chen H, Hirota K, et al.: Disruption of oxygen homeostasis underlies congenital Chuvash polycythemia. Nat Genet 32 (4): 614-21, 2002.12415268
Pastore YD, Jelinek J, Ang S, et al.: Mutations in the VHL gene in sporadic apparently congenital polycythemia. Blood 101 (4): 1591-5, 2003.12393546
Cario H, Schwarz K, Jorch N, et al.: Mutations in the von Hippel-Lindau (VHL) tumor suppressor gene and VHL-haplotype analysis in patients with presumable congenital erythrocytosis. Haematologica 90 (1): 19-24, 2005.15642664
Popova T, Hebert L, Jacquemin V, et al.: Germline BAP1 mutations predispose to renal cell carcinomas. Am J Hum Genet 92 (6): 974-80, 2013.23684012
Farley MN, Schmidt LS, Mester JL, et al.: A novel germline mutation in BAP1 predisposes to familial clear-cell renal cell carcinoma. Mol Cancer Res 11 (9): 1061-71, 2013.23709298
Cancer Genome Atlas Research Network: Comprehensive molecular characterization of clear cell renal cell carcinoma. Nature 499 (7456): 43-9, 2013.23792563
Benusiglio PR, Couvé S, Gilbert-Dussardier B, et al.: A germline mutation in PBRM1 predisposes to renal cell carcinoma. J Med Genet 52 (6): 426-30, 2015.25911086

## Molecular Biology

The VHL tumor suppressor gene encodes two proteins: a 213 amino acid protein (pVHL30) and a 154 amino acid protein, which is the product of internal translation.[1] pVHL is best known for its regulation of hypoxia-inducible factor (HIF) activity, which is linked to tumor suppression. Other reported functions of pVHL include regulation of extracellular matrix formation, microtubule and centrosome maturation, and p53 inactivation.[2-5] These functions are described in more detail in the following paragraphs.

### HIF1-Alpha and HIF2-Alpha

pVHL regulates protein levels of HIF1-alpha and HIF2-alpha in the cell by acting as a substrate recognition site for HIF as part of an E3 ubiquitin ligase complex.[5] In normoxic conditions, HIF1-alpha and HIF2-alpha are enzymatically hydroxylated by intracellular prolyl hydroxylases. The hydroxylated HIF subunits are bound by the VHL protein complex, covalently linked to ubiquitin, and degraded by the S26 proteasome.[6,7]

Hypoxia inactivates prolyl hydroxylases, leading to lack of HIF hydroxylation. Nonhydroxylated HIF1-alpha and HIF2-alpha are not bound to the VHL protein complex for ubiquitination, and therefore, accumulate. The resulting constitutively high levels of HIF1-alpha and HIF2-alpha drive increased transcription of a variety of genes, including growth and angiogenic factors, enzymes of the intermediary metabolism, and genes promoting stemness-like cellular phenotypes.[8]

HIF1-alpha and HIF2-alpha possess distinct and partially contrasting functional characteristics. In the context of renal cell carcinoma (RCC), it appears that the EPAS1 gene, also known as HIF2A, acts as an oncogene, and HIF1A acts as a tumor suppressor gene. HIF2-alpha may preferentially upregulate Myc activity, whereas HIF1-alpha may inhibit Myc activity.[9] Hypoxia-associated factor has been shown to increase HIF2-alpha transactivation [10] and HIF1-alpha instability.[11] Preferential loss of chromosome 14q, the locus for the HIF1A gene, results in decreased levels of HIF1-alpha protein.[12]

Numerous studies using xenografted or transgenic animal models have shown that inactivation of HIF2-alpha by pVHL is necessary and sufficient for tumor suppression by the pVHL proteins. HIF2-alpha is now an established therapeutic target for von Hippel-Lindau disease (VHL)-related malignancies.[13-15] Specific HIF2-alpha inhibitors are in preclinical and clinical testing.[16-18]

### Microtubule Regulation and Cilia Centrosome Control

Emerging data point to the importance of pVHL-mediated control of the primary cilium and the cilia centrosome cycle. The nonmotile primary cilium acts as a mechanosensor, regulates cell signaling, and controls cellular entry into mitosis.[19] The loss of primary ciliary function results in the loss of the cell’s ability to maintain planar cell polarity; thus ultimately results in cyst formation.[20] The loss of pVHL results in the loss of the primary cilium.[21] pVHL binds to and stabilizes microtubules [22] in a glycogen synthase 3–dependent fashion.[23] The loss of pVHL, or expression of variant pVHL in cells, also results in unstable astral microtubules, dysregulation of the spindle assembly checkpoint, and an increase in aneuploidy.[4]

### Cell Cycle Control

pVHL reintroduction induces cell cycle arrest and p27 upregulation after serum withdrawal in VHL-null cell lines.[2] Additionally, pVHL destabilizes Skp2, and upregulates p27 in response to DNA damage.[24] Nuclear localization and intensity of p27 is inversely associated with tumor grade.[25] pVHL binds to [26] and facilitates phosphorylation of p53 in an ATM-dependent fashion.[27]

### Extracellular Matrix Control

Functional pVHL is needed for appropriate assembly of an extracellular fibronectin matrix.[28] Additionally, phosphorylation of pVHL regulates binding of fibronectin and secretion into the extracellular space.[29]

### Regulation of Oncogenic Autophagy

In clear cell renal cell carcinoma (ccRCC), oncogenic autophagy dependent on microtubule-associated protein 1 light chain 3 alpha and beta (LC3A and LC3B) is stimulated by activity of the transient receptor potential melastatin 3 (TRPM3) channel through multiple complementary mechanisms. The VHL tumor suppressor represses this oncogenic autophagy in a coordinated manner through the activity of miR-204, which is expressed from intron 6 of the gene encoding TRPM3. TRPM3 represents an actionable target for ccRCC treatment.[30,31]

### Animal Models of VHL

Vhl-knockout mice die in utero. Heterozygous Vhl mice develop vascular liver lesions reminiscent of hemangioblastomas.[32] Conditional targeted inactivation of the Vhl gene in the mouse kidney results in the generation of VHL-resembling cysts but not RCC. Coordinate inactivation of Vhl and Pten results in a higher rate of cyst formation, but no obvious RCC.[33] Murine homologues of the Vhl R200W pathogenic variant induced polycythemia in mice, phenocopying Chuvash polycythemia.[34] The discovery of several new potential tumor suppressor genes inactivated in the context of RCC, including PBRM1,[35] SETD2,[36] and BAP1,[37] provide new avenues for developing relevant animal models of at least some VHL manifestations.

### References

Iliopoulos O, Ohh M, Kaelin WG: pVHL19 is a biologically active product of the von Hippel-Lindau gene arising from internal translation initiation. Proc Natl Acad Sci U S A 95 (20): 11661-6, 1998.9751722
Pause A, Lee S, Lonergan KM, et al.: The von Hippel-Lindau tumor suppressor gene is required for cell cycle exit upon serum withdrawal. Proc Natl Acad Sci U S A 95 (3): 993-8, 1998.9448273
Kurban G, Hudon V, Duplan E, et al.: Characterization of a von Hippel Lindau pathway involved in extracellular matrix remodeling, cell invasion, and angiogenesis. Cancer Res 66 (3): 1313-9, 2006.16452184
Thoma CR, Toso A, Gutbrodt KL, et al.: VHL loss causes spindle misorientation and chromosome instability. Nat Cell Biol 11 (8): 994-1001, 2009.19620968
Maxwell PH, Wiesener MS, Chang GW, et al.: The tumour suppressor protein VHL targets hypoxia-inducible factors for oxygen-dependent proteolysis. Nature 399 (6733): 271-5, 1999.10353251
Ivan M, Kondo K, Yang H, et al.: HIFalpha targeted for VHL-mediated destruction by proline hydroxylation: implications for O2 sensing. Science 292 (5516): 464-8, 2001.11292862
Jaakkola P, Mole DR, Tian YM, et al.: Targeting of HIF-alpha to the von Hippel-Lindau ubiquitylation complex by O2-regulated prolyl hydroxylation. Science 292 (5516): 468-72, 2001.11292861
Keith B, Johnson RS, Simon MC: HIF1α and HIF2α: sibling rivalry in hypoxic tumour growth and progression. Nat Rev Cancer 12 (1): 9-22, 2012.22169972
Gordan JD, Bertout JA, Hu CJ, et al.: HIF-2alpha promotes hypoxic cell proliferation by enhancing c-myc transcriptional activity. Cancer Cell 11 (4): 335-47, 2007.17418410
Koh MY, Lemos R, Liu X, et al.: The hypoxia-associated factor switches cells from HIF-1α- to HIF-2α-dependent signaling promoting stem cell characteristics, aggressive tumor growth and invasion. Cancer Res 71 (11): 4015-27, 2011.21512133
Koh MY, Darnay BG, Powis G: Hypoxia-associated factor, a novel E3-ubiquitin ligase, binds and ubiquitinates hypoxia-inducible factor 1alpha, leading to its oxygen-independent degradation. Mol Cell Biol 28 (23): 7081-95, 2008.18838541
Monzon FA, Alvarez K, Peterson L, et al.: Chromosome 14q loss defines a molecular subtype of clear-cell renal cell carcinoma associated with poor prognosis. Mod Pathol 24 (11): 1470-9, 2011.21725288
Kondo K, Klco J, Nakamura E, et al.: Inhibition of HIF is necessary for tumor suppression by the von Hippel-Lindau protein. Cancer Cell 1 (3): 237-46, 2002.12086860
Kondo K, Kim WY, Lechpammer M, et al.: Inhibition of HIF2alpha is sufficient to suppress pVHL-defective tumor growth. PLoS Biol 1 (3): E83, 2003.14691554
Zimmer M, Doucette D, Siddiqui N, et al.: Inhibition of hypoxia-inducible factor is sufficient for growth suppression of VHL-/- tumors. Mol Cancer Res 2 (2): 89-95, 2004.14985465
Zimmer M, Ebert BL, Neil C, et al.: Small-molecule inhibitors of HIF-2a translation link its 5'UTR iron-responsive element to oxygen sensing. Mol Cell 32 (6): 838-48, 2008.19111663
Metelo AM, Noonan HR, Li X, et al.: Pharmacological HIF2α inhibition improves VHL disease-associated phenotypes in zebrafish model. J Clin Invest 125 (5): 1987-97, 2015.25866969
Scheuermann TH, Li Q, Ma HW, et al.: Allosteric inhibition of hypoxia inducible factor-2 with small molecules. Nat Chem Biol 9 (4): 271-6, 2013.23434853
Pan J, Snell W: The primary cilium: keeper of the key to cell division. Cell 129 (7): 1255-7, 2007.17604715
Simons M, Walz G: Polycystic kidney disease: cell division without a c(l)ue? Kidney Int 70 (5): 854-64, 2006.16816842
Thoma CR, Frew IJ, Hoerner CR, et al.: pVHL and GSK3beta are components of a primary cilium-maintenance signalling network. Nat Cell Biol 9 (5): 588-95, 2007.17450132
Hergovich A, Lisztwan J, Barry R, et al.: Regulation of microtubule stability by the von Hippel-Lindau tumour suppressor protein pVHL. Nat Cell Biol 5 (1): 64-70, 2003.12510195
Hergovich A, Lisztwan J, Thoma CR, et al.: Priming-dependent phosphorylation and regulation of the tumor suppressor pVHL by glycogen synthase kinase 3. Mol Cell Biol 26 (15): 5784-96, 2006.16847331
Roe JS, Kim HR, Hwang IY, et al.: von Hippel-Lindau protein promotes Skp2 destabilization on DNA damage. Oncogene 30 (28): 3127-38, 2011.21358672
Kim J, Jonasch E, Alexander A, et al.: Cytoplasmic sequestration of p27 via AKT phosphorylation in renal cell carcinoma. Clin Cancer Res 15 (1): 81-90, 2009.19118035
Roe JS, Youn HD: The positive regulation of p53 by the tumor suppressor VHL. Cell Cycle 5 (18): 2054-6, 2006.16969113
Roe JS, Kim H, Lee SM, et al.: p53 stabilization and transactivation by a von Hippel-Lindau protein. Mol Cell 22 (3): 395-405, 2006.16678111
Ohh M, Yauch RL, Lonergan KM, et al.: The von Hippel-Lindau tumor suppressor protein is required for proper assembly of an extracellular fibronectin matrix. Mol Cell 1 (7): 959-68, 1998.9651579
Lolkema MP, Gervais ML, Snijckers CM, et al.: Tumor suppression by the von Hippel-Lindau protein requires phosphorylation of the acidic domain. J Biol Chem 280 (23): 22205-11, 2005.15824109
Hall DP, Cost NG, Hegde S, et al.: TRPM3 and miR-204 establish a regulatory circuit that controls oncogenic autophagy in clear cell renal cell carcinoma. Cancer Cell 26 (5): 738-53, 2014.25517751
Mikhaylova O, Stratton Y, Hall D, et al.: VHL-regulated MiR-204 suppresses tumor growth through inhibition of LC3B-mediated autophagy in renal clear cell carcinoma. Cancer Cell 21 (4): 532-46, 2012.22516261
Haase VH, Glickman JN, Socolovsky M, et al.: Vascular tumors in livers with targeted inactivation of the von Hippel-Lindau tumor suppressor. Proc Natl Acad Sci U S A 98 (4): 1583-8, 2001.11171994
Frew IJ, Thoma CR, Georgiev S, et al.: pVHL and PTEN tumour suppressor proteins cooperatively suppress kidney cyst formation. EMBO J 27 (12): 1747-57, 2008.18497742
Hickey MM, Lam JC, Bezman NA, et al.: von Hippel-Lindau mutation in mice recapitulates Chuvash polycythemia via hypoxia-inducible factor-2alpha signaling and splenic erythropoiesis. J Clin Invest 117 (12): 3879-89, 2007.17992257
Varela I, Tarpey P, Raine K, et al.: Exome sequencing identifies frequent mutation of the SWI/SNF complex gene PBRM1 in renal carcinoma. Nature 469 (7331): 539-42, 2011.21248752
Dalgliesh GL, Furge K, Greenman C, et al.: Systematic sequencing of renal carcinoma reveals inactivation of histone modifying genes. Nature 463 (7279): 360-3, 2010.20054297
Peña-Llopis S, Vega-Rubín-de-Celis S, Liao A, et al.: BAP1 loss defines a new class of renal cell carcinoma. Nat Genet 44 (7): 751-9, 2012.22683710

## Clinical Manifestations

### Age Ranges and Cumulative Risk of Different Syndrome-Related Neoplasms

The age of onset for von Hippel-Lindau disease (VHL) varies both between different families and between members of the same family. This fact informs the guidelines for starting age and frequency of presymptomatic surveillance examinations. Of all VHL manifestations, retinal hemangioblastomas and pheochromocytomas (PHEOs) have the youngest age of onset; hence, targeted screening is recommended in children younger than 10 years. At least one study has demonstrated that the incidence of new lesions varies depending on patient age, the underlying pathogenic variant, and the organ involved.[1] Examples of reported mean ages and age ranges of VHL clinical manifestations are summarized in Table 1.

Table 1. Neoplasms in von Hippel-Lindau Disease: Mean Age at Diagnosis and Cumulative Risk in Affected Patients^a,b^

Neoplasm | Mean Age (Range) in y | Cumulative Risk (%)
Renal cell carcinoma | 37 (16–67) | 24–45
PHEO | 30 (5–58) | 10–20
Pancreatic tumor or cyst | 36 (5–70) | 35–70
Retinal hemangioblastoma | 25 (1–67) | 25–60
Cerebellar hemangioblastoma | 33 (9–78) | 44–72
Brainstem hemangioblastoma | 32 (12–46) | 10–25
Spinal cord hemangioblastoma | 33 (12–66) | 13–50
Endolymphatic sac tumor | 22 (12–50) | 10

PHEO = pheochromocytoma

^a^Adapted from Choyke et al.[2] and Lonser et al.[3]

^b^Limited data are available for cystadenomas of the broad/round ligament and epididymis.

For more information, see the Clinical Diagnosis of VHL section.

### References

Binderup ML, Budtz-Jørgensen E, Bisgaard ML: Risk of new tumors in von Hippel-Lindau patients depends on age and genotype. Genet Med 18 (1): 89-97, 2016.25834951
Choyke PL, Glenn GM, Walther MM, et al.: von Hippel-Lindau disease: genetic, clinical, and imaging features. Radiology 194 (3): 629-42, 1995.7862955
Lonser RR, Glenn GM, Walther M, et al.: von Hippel-Lindau disease. Lancet 361 (9374): 2059-67, 2003.12814730

## Tissue Manifestations

### Renal Manifestations

More than 55% of individuals with von Hippel-Lindau disease (VHL) only develop multiple renal cell cysts. VHL-associated renal cell carcinomas (RCCs) are characteristically multifocal and bilateral. These RCCs present as masses with both cystic and solid characteristics.[1] In VHL, the cumulative risk of RCC was reported to be 24% to 45%. RCCs smaller than 3 cm tend to be low-grade (Fuhrman nuclear grade 2) and minimally invasive.[2] However, their growth rate varies widely.[3] An investigation of 228 renal lesions in 28 patients who were followed for at least 1 year showed that transition from a simple cyst to a solid lesion was infrequent.[1] Complex cystic and solid lesions contained neoplastic tissue that was uniformly enlarged. These data may be used to predict the progression of renal lesions (from benign to malignant) in patients with VHL. Figure 1 depicts bilateral renal tumors in a patient with VHL.

Figure 1. von Hippel-Lindau disease–associated renal cell cancers are characteristically multifocal and bilateral and present as combined cystic and solid masses. The red arrow shows a lesion with a solid and cystic component, and the white arrow shows a predominantly solid lesion.

Axial view of an individual’s midsection showing tumors in both kidneys. The left kidney has a tumor with a dark cystic component and the right kidney has a predominantly solid tumor.

Tumors larger than 3 cm may increase in grade as they grow, and metastasis may occur.[3,4] RCCs often remain asymptomatic for long periods of time.

### Retinal Hemangioblastomas

Retinal manifestations, which were first reported more than a century ago, were one of the first recognized VHL features. Retinal hemangioblastomas (also known as capillary retinal angiomas) are one of the most common manifestations of VHL and are present in more than 50% of patients.[5] Retinal involvement is one of the earliest manifestations of VHL, with a mean age of onset at 25 years.[6,7] These tumors are the first VHL manifestation in nearly 80% of affected individuals and may occur in children as young as 1 year.[7-9] Sporadic retinal hemangioblastomas are rare; one registry study reported that 84% of these tumors were associated with VHL.[10]

Retinal hemangioblastomas occur most frequently in the periphery of the retina. They can also occur in other locations like the optic nerve, which is a more difficult area to treat. Retinal hemangioblastomas are bright orange spherical tumors that are supplied by a tortuous vascular supply. Nearly 50% of patients have bilateral retinal hemangioblastomas.[5] The median number of lesions per affected eye is six.[11] Patients with VHL can also have other retinal lesions, including retinal vascular hamartomas and flat vascular tumors located in the superficial aspect of the retina.[12]

Longitudinal studies help explain the natural history of these tumors. If left untreated, retinal hemangioblastomas can be a major source of morbidity in patients with VHL. Approximately 8% of patients [5] will develop blindness caused by various mechanisms like secondary maculopathy; this can contribute to retinal detachment or directly cause retinal neurodegeneration.[13] One study suggested that visual impairment severity (including the need for enucleation and the development of phthisis) may depend on a patient's VHL genotype.[14] Patients with symptomatic retinal lesions often have many large retinal hemangioblastomas. Long-term follow-up studies demonstrate that most retinal lesions grow slowly and that new lesions do not develop frequently.[11,15]

### Cerebellar and Spinal Hemangioblastomas

Hemangioblastomas are the most common disease manifestation in patients with VHL, affecting more than 70% of individuals. A prospective study assessed the natural history of hemangioblastomas.[16] The mean age at onset of central nervous system (CNS) hemangioblastomas is 29.1 years (range, 7–73 y).[17] CNS hemangioblastomas were most commonly seen in the cerebellum (45%), spinal cord (36%), cauda equina (11%), and brain stem (7%).[18] While sporadic hemangioblastomas are generally solitary in nature, the VHL-associated CNS lesions are often multifocal. After a mean follow-up of 7 years, 72% of the 225 patients studied developed new lesions.[18] Figures 2 and 3 depict cerebellar and spinal hemangioblastomas, respectively, in patients with VHL.

Figure 2. Hemangioblastomas are the most common disease manifestation in patients with von Hippel-Lindau disease. The left panel shows a sagittal view of brainstem and cerebellar lesions. The middle panel shows an axial view of a brainstem lesion. The right panel shows a cerebellar lesion (red arrow) with a dominant cystic component (white arrow).

Three-panel image showing a sagittal view of two prominent light-colored brainstem and cerebellar lesions (left panel), an axial view of a prominent brainstem lesion (middle panel), and an axial view of a cerebellar lesion with a large, dark area that is a cystic component (right panel).

Figure 3. Hemangioblastomas are the most common disease manifestation in patients with von Hippel-Lindau disease. Multiple spinal cord hemangioblastomas are shown.

Sagittal view of an individual’s neck showing several light-colored lesions along the spinal cord.

### Pheochromocytomas and Paragangliomas

The rate of pheochromocytoma (PHEO) formation in the VHL patient population is 25% to 30%.[19,20] Of patients with VHL-associated PHEOs, 44% developed disease in both adrenal glands.[21] The rate of malignant transformation is very low. Levels of plasma and urine normetanephrine are typically elevated in patients with VHL,[22] and approximately two-thirds will experience physical manifestations such as hypertension, tachycardia, and palpitations.[19] Patients with a partial loss of VHL function (type 2 disease) are at a higher risk of developing PHEOs than VHL patients with a complete loss of VHL function (type 1 disease); the latter develop PHEOs very rarely.[19,23-25] In a cohort of 182 patients with PHEOs and paragangliomas (PGLs) that were not associated with a VHL diagnosis, only one patient had a VHL germline pathogenic variant.[26]

PGLs are rare in VHL patients but can occur in the head and neck or in the abdomen.[27] A review of VHL patients who developed PHEOs and/or PGLs revealed that 90% of patients manifested PHEOs and only 19% presented with a PGL.[21]

The mean age at diagnosis of VHL-related PHEOs and PGLs is approximately 30 years.[20,28] Patients with multiple tumors were diagnosed more than a decade earlier than patients with solitary lesions in one series (19 vs. 34 y; P < .001).[28] PHEO diagnosis occurred in patients as young as age 5 years in one cohort,[20] providing a rationale for early testing. All 21 pediatric patients with PHEOs in this 273-patient cohort had elevated plasma normetanephrines.[20]

### Pancreatic Manifestations

Patients with VHL may develop multiple serous cystadenomas, pancreatic neuroendocrine tumors (NETs), and simple pancreatic cysts.[6,7] One study reported that 15% of patients with VHL developed pancreatic NETs.[29] VHL patients do not have an increased risk of pancreatic adenocarcinoma. Serous cystadenomas are benign tumors and warrant no intervention. VHL patients can develop many pancreatic cysts, but these cysts rarely cause symptomatic biliary duct obstruction. Endocrine function is nearly always maintained; however, patients with extensive cystic disease may require pancreatic surgery and pancreatic exocrine supplementation.

Pancreatic cysts and cystadenomas are not malignant, but pancreatic NETs possess malignant characteristics.[30] Pancreatic NETs are usually nonfunctional, but they can metastasize to the lymph nodes and the liver. The risk of pancreatic NET metastasis was analyzed in a large cohort of patients, in which the mean age of pancreatic NET diagnosis was 38 years (range, 16–68 y).[31] The risk of metastasis was lower in patients with small primary lesions (≤3 cm), in patients without an exon 3 pathogenic variant, and in patients whose tumor had a slow doubling time (>500 days). Nonfunctional pancreatic NETs can be monitored by imaging surveillance with intervention when tumors reach 3 cm. Lesions in the head of the pancreas can be considered for surgery at a smaller size to limit operative complexity.

### Endolymphatic Sac Tumors (ELSTs)

ELSTs are adenomatous tumors arising from the endolymphatic duct or sac within the posterior part of the petrous bone.[32] ELSTs are rare in the sporadic setting, but are apparent on imaging in 11% to 16% of patients with VHL. Although these tumors do not metastasize, they are locally invasive, eroding through the petrous bone and the inner ear structures.[32,33] Approximately 30% of VHL patients with ELSTs have bilateral lesions.[32,34]

ELSTs are an important cause of morbidity in VHL patients. ELSTs evident on imaging are associated with a variety of symptoms, including hearing loss (95% of patients), tinnitus (92%), vestibular symptoms (such as vertigo or disequilibrium) (62%), aural fullness (29%), and facial paresis (8%).[32,33] In approximately half of patients, symptoms (particularly hearing loss) can occur suddenly, probably as a result of acute intralabyrinthine hemorrhage.[33] Hearing loss or vestibular dysfunction in VHL patients can also present in the absence of radiologically evident ELSTs (approximately 60% of all symptomatic patients) and is believed to be a consequence of microscopic ELSTs.[32]

Hearing loss related to ELSTs is typically irreversible; serial imaging to enable early detection of ELSTs in asymptomatic patients and resection of radiologically evident lesions are important components in the management of VHL patients.[35,36] Surgical resection by retrolabyrinthine posterior petrosectomy is usually curative and can prevent onset or worsening of hearing loss; this procedure can also improve vestibular symptoms.[33,35]

### Broad/Round Ligament Papillary Cystadenomas

Tumors of the broad ligament can occur in females with VHL and are known as papillary cystadenomas. These tumors are extremely rare, and fewer than 20 have been reported in the literature.[37] Papillary cystadenomas are histologically identical to epididymal cystadenomas, which are commonly observed in males with VHL.[38] One important difference is that papillary cystadenomas are almost exclusively observed in patients with VHL, whereas epididymal cystadenomas can occur sporadically.[39] These tumors are frequently cystic, and although they can become large, they generally have fairly indolent behavior.

### Epididymal Cystadenomas

Fluid-filled epididymal cysts, or spermatoceles, are very common in adult men. In VHL, the epididymis can contain more complex cystic neoplasms known as papillary cystadenomas, which are rare in the general population. More than one-third of all cases of epididymal cystadenomas reported in the literature and most cases of bilateral cystadenomas have been reported in patients with VHL.[40] These well-circumscribed lesions have variable amounts of cystic and papillary components that are lined with epithelial cuboidal or columnar clear cells.[41] Among symptomatic patients, the most common presentation of epididymal cystadenoma is a painless, slow-growing scrotal swelling. The differential diagnoses of epididymal tumors include adenomatoid tumor (which is the most common tumor in this site), metastatic ccRCC, and papillary mesothelioma.[42]

In a small series, histological analysis did not reveal features typically associated with malignancy, such as mitotic figures, nuclear pleomorphism, and necrosis. Lesions were strongly positive for CK7 and negative for RCC. Carbonic anhydrase IX (CAIX) was positive in all tumors. PAX8 was positive in most cases. These features were reminiscent of clear cell papillary RCC, a relatively benign form of RCC without known metastatic potential.[38]

### References

Choyke PL, Glenn GM, Walther MM, et al.: The natural history of renal lesions in von Hippel-Lindau disease: a serial CT study in 28 patients. AJR Am J Roentgenol 159 (6): 1229-34, 1992.1442389
Poston CD, Jaffe GS, Lubensky IA, et al.: Characterization of the renal pathology of a familial form of renal cell carcinoma associated with von Hippel-Lindau disease: clinical and molecular genetic implications. J Urol 153 (1): 22-6, 1995.7966777
Walther MM, Choyke PL, Glenn G, et al.: Renal cancer in families with hereditary renal cancer: prospective analysis of a tumor size threshold for renal parenchymal sparing surgery. J Urol 161 (5): 1475-9, 1999.10210376
Walther MM, Lubensky IA, Venzon D, et al.: Prevalence of microscopic lesions in grossly normal renal parenchyma from patients with von Hippel-Lindau disease, sporadic renal cell carcinoma and no renal disease: clinical implications. J Urol 154 (6): 2010-4; discussion 2014-5, 1995.7500446
Chew EY: Ocular manifestations of von Hippel-Lindau disease: clinical and genetic investigations. Trans Am Ophthalmol Soc 103: 495-511, 2005.17057815
Choyke PL, Glenn GM, Walther MM, et al.: von Hippel-Lindau disease: genetic, clinical, and imaging features. Radiology 194 (3): 629-42, 1995.7862955
Lonser RR, Glenn GM, Walther M, et al.: von Hippel-Lindau disease. Lancet 361 (9374): 2059-67, 2003.12814730
Dollfus H, Massin P, Taupin P, et al.: Retinal hemangioblastoma in von Hippel-Lindau disease: a clinical and molecular study. Invest Ophthalmol Vis Sci 43 (9): 3067-74, 2002.12202531
Wong WT, Agrón E, Coleman HR, et al.: Clinical characterization of retinal capillary hemangioblastomas in a large population of patients with von Hippel-Lindau disease. Ophthalmology 115 (1): 181-8, 2008.17543389
Binderup MLM, Stendell AS, Galanakis M, et al.: Retinal hemangioblastoma: prevalence, incidence and frequency of underlying von Hippel-Lindau disease. Br J Ophthalmol 102 (7): 942-947, 2018.28972023
Kreusel KM, Bechrakis NE, Krause L, et al.: Retinal angiomatosis in von Hippel-Lindau disease: a longitudinal ophthalmologic study. Ophthalmology 113 (8): 1418-24, 2006.16769118
Schmidt D, Neumann HP: Retinal vascular hamartoma in von Hippel-Lindau disease. Arch Ophthalmol 113 (9): 1163-7, 1995.7661750
Wittström E, Nordling M, Andréasson S: Genotype-phenotype correlations, and retinal function and structure in von Hippel-Lindau disease. Ophthalmic Genet 35 (2): 91-106, 2014.24555745
Reich M, Jaegle S, Neumann-Haefelin E, et al.: Genotype-phenotype correlation in von Hippel-Lindau disease. Acta Ophthalmol 99 (8): e1492-e1500, 2021.33720516
Toy BC, Agrón E, Nigam D, et al.: Longitudinal analysis of retinal hemangioblastomatosis and visual function in ocular von Hippel-Lindau disease. Ophthalmology 119 (12): 2622-30, 2012.22906772
Huntoon K, Wu T, Elder JB, et al.: Biological and clinical impact of hemangioblastoma-associated peritumoral cysts in von Hippel-Lindau disease. J Neurosurg 124 (4): 971-6, 2016.26517769
Kanno H, Kuratsu J, Nishikawa R, et al.: Clinical features of patients bearing central nervous system hemangioblastoma in von Hippel-Lindau disease. Acta Neurochir (Wien) 155 (1): 1-7, 2013.23080552
Lonser RR, Butman JA, Huntoon K, et al.: Prospective natural history study of central nervous system hemangioblastomas in von Hippel-Lindau disease. J Neurosurg 120 (5): 1055-62, 2014.24579662
Walther MM, Reiter R, Keiser HR, et al.: Clinical and genetic characterization of pheochromocytoma in von Hippel-Lindau families: comparison with sporadic pheochromocytoma gives insight into natural history of pheochromocytoma. J Urol 162 (3 Pt 1): 659-64, 1999.10458336
Aufforth RD, Ramakant P, Sadowski SM, et al.: Pheochromocytoma Screening Initiation and Frequency in von Hippel-Lindau Syndrome. J Clin Endocrinol Metab 100 (12): 4498-504, 2015.26451910
Welander J, Söderkvist P, Gimm O: Genetics and clinical characteristics of hereditary pheochromocytomas and paragangliomas. Endocr Relat Cancer 18 (6): R253-76, 2011.22041710
Eisenhofer G, Walther MM, Huynh TT, et al.: Pheochromocytomas in von Hippel-Lindau syndrome and multiple endocrine neoplasia type 2 display distinct biochemical and clinical phenotypes. J Clin Endocrinol Metab 86 (5): 1999-2008, 2001.11344198 21242783
Zbar B, Kishida T, Chen F, et al.: Germline mutations in the Von Hippel-Lindau disease (VHL) gene in families from North America, Europe, and Japan. Hum Mutat 8 (4): 348-57, 1996.8956040
Chen F, Slife L, Kishida T, et al.: Genotype-phenotype correlation in von Hippel-Lindau disease: identification of a mutation associated with VHL type 2A. J Med Genet 33 (8): 716-7, 1996.8863170
Friedrich CA: Genotype-phenotype correlation in von Hippel-Lindau syndrome. Hum Mol Genet 10 (7): 763-7, 2001.11257110
Eisenhofer G, Vocke CD, Elkahloun A, et al.: Genetic screening for von Hippel-Lindau gene mutations in non-syndromic pheochromocytoma: low prevalence and false-positives or misdiagnosis indicate a need for caution. Horm Metab Res 44 (5): 343-8, 2012.22438210
Shuch B, Ricketts CJ, Metwalli AR, et al.: The genetic basis of pheochromocytoma and paraganglioma: implications for management. Urology 83 (6): 1225-32, 2014.24642075
Eisenhofer G, Timmers HJ, Lenders JW, et al.: Age at diagnosis of pheochromocytoma differs according to catecholamine phenotype and tumor location. J Clin Endocrinol Metab 96 (2): 375-84, 2011.21147885
Charlesworth M, Verbeke CS, Falk GA, et al.: Pancreatic lesions in von Hippel-Lindau disease? A systematic review and meta-synthesis of the literature. J Gastrointest Surg 16 (7): 1422-8, 2012.22370733
Libutti SK, Choyke PL, Bartlett DL, et al.: Pancreatic neuroendocrine tumors associated with von Hippel Lindau disease: diagnostic and management recommendations. Surgery 124 (6): 1153-9, 1998.9854597
Blansfield JA, Choyke L, Morita SY, et al.: Clinical, genetic and radiographic analysis of 108 patients with von Hippel-Lindau disease (VHL) manifested by pancreatic neuroendocrine neoplasms (PNETs). Surgery 142 (6): 814-8; discussion 818.e1-2, 2007.18063061
Manski TJ, Heffner DK, Glenn GM, et al.: Endolymphatic sac tumors. A source of morbid hearing loss in von Hippel-Lindau disease. JAMA 277 (18): 1461-6, 1997.9145719
Choo D, Shotland L, Mastroianni M, et al.: Endolymphatic sac tumors in von Hippel-Lindau disease. J Neurosurg 100 (3): 480-7, 2004.15035284
Megerian CA, Haynes DS, Poe DS, et al.: Hearing preservation surgery for small endolymphatic sac tumors in patients with von Hippel-Lindau syndrome. Otol Neurotol 23 (3): 378-87, 2002.11981399
Kim HJ, Butman JA, Brewer C, et al.: Tumors of the endolymphatic sac in patients with von Hippel-Lindau disease: implications for their natural history, diagnosis, and treatment. J Neurosurg 102 (3): 503-12, 2005.15796386
Lonser RR, Kim HJ, Butman JA, et al.: Tumors of the endolymphatic sac in von Hippel-Lindau disease. N Engl J Med 350 (24): 2481-6, 2004.15190140
Nogales FF, Goyenaga P, Preda O, et al.: An analysis of five clear cell papillary cystadenomas of mesosalpinx and broad ligament: four associated with von Hippel-Lindau disease and one aggressive sporadic type. Histopathology 60 (5): 748-57, 2012.22296276
Cox R, Vang R, Epstein JI: Papillary cystadenoma of the epididymis and broad ligament: morphologic and immunohistochemical overlap with clear cell papillary renal cell carcinoma. Am J Surg Pathol 38 (5): 713-8, 2014.24441657
Brady A, Nayar A, Cross P, et al.: A detailed immunohistochemical analysis of 2 cases of papillary cystadenoma of the broad ligament: an extremely rare neoplasm characteristic of patients with von hippel-lindau disease. Int J Gynecol Pathol 31 (2): 133-40, 2012.22317868
Odrzywolski KJ, Mukhopadhyay S: Papillary cystadenoma of the epididymis. Arch Pathol Lab Med 134 (4): 630-3, 2010.20367315
Uppuluri S, Bhatt S, Tang P, et al.: Clear cell papillary cystadenoma with sonographic and histopathologic correlation. J Ultrasound Med 25 (11): 1451-3, 2006.17060433
Vijayvargiya M, Jain D, Mathur SR, et al.: Papillary cystadenoma of the epididymis associated with von Hippel-Lindau disease diagnosed on fine needle aspiration cytology. Cytopathology 25 (4): 279-81, 2014.23901807

## Genetic Risk Assessment for von Hippel-Lindau Disease (VHL)

The primary risk factor for VHL (or any hereditary forms of renal cancer) is an affected family member. Risk assessment should also consider gender and age for specific VHL-related neoplasms. For example, pheochromocytomas (PHEOs) may develop in early childhood,[1] sometimes occurring in patients as young as 8 years.[2] Gender-specific VHL clinical findings include epididymal cystadenomas in males (10%–26%), which are virtually pathognomonic for VHL, especially when bilateral. These lesions occur rarely in the general population. Epididymal cysts are also common in VHL, but they are reported in 23% of the general population, making them a poor diagnostic discriminator.[1] Females have lesions that are histologically similar to cystadenomas, which occur in the broad ligament.

Each child of an individual with VHL has a 50% chance of inheriting the VHL variant allele from the affected parent.

### Clinical Diagnosis of VHL

Diagnosis of VHL is frequently based on clinical criteria. If there is family history of VHL, a previously unevaluated family member can be clinically diagnosed with VHL if this person presents with one or more VHL-related tumors (e.g., CNS/retinal hemangioblastomas, PHEOs, ccRCCs, or endolymphatic sac tumors). If a patient does not have a family history of VHL, he/she must meet one of the following criteria: (1) two or more CNS hemangioblastomas, or (2) one CNS hemangioblastoma and either (a) a visceral tumor or (b) an endolymphatic sac tumor. For more information about VHL diagnostic details, see Table 2.[3-5]

In 1998, all germline pathogenic variants identified in a cohort of 93 VHL families were reported. Since then, VHL diagnosis has been based on a combination of the following: (1) identifying clinical VHL-associated manifestations, and (2) conducting genetic testing for VHL pathogenic variants identified within families. This diagnostic strategy can differ for individual family members. Table 2 summarizes a combined approach that uses both methods (i.e., identifying VHL clinical manifestations and VHL genetic testing).

Table 2. Diagnostic Approaches for von Hippel-Lindau Disease (VHL) in Individuals With and Without a Family History

Family History of VHL | Genetic Testing | Scenarios for Clinical Diagnosis | Requirements for Clinical Diagnosis
With a family history of VHL | Test DNA for the same VHL pathogenic variant as previously identified in an affected biological relative(s) | When the VHL pathogenic variant in a biological relative is unknown | At least one of the following is required for clinical diagnosis:
With a family history of VHL | Test DNA for the same VHL pathogenic variant as previously identified in an affected biological relative(s) | When the VHL pathogenic variant in a biological relative is unknown | - Epididymal or broad ligament cystadenoma
With a family history of VHL | Test DNA for the same VHL pathogenic variant as previously identified in an affected biological relative(s) | When the VHL pathogenic variant in a biological relative is unknown | - CNS hemangioblastoma
With a family history of VHL | Test DNA for the same VHL pathogenic variant as previously identified in an affected biological relative(s) | When the VHL pathogenic variant in a biological relative is unknown | - Multifocal ccRCC
With a family history of VHL | Test DNA for the same VHL pathogenic variant as previously identified in an affected biological relative(s) | When the VHL pathogenic variant in a biological relative is unknown | - PHEO
With a family history of VHL | Test DNA for the same VHL pathogenic variant as previously identified in an affected biological relative(s) | When the VHL pathogenic variant in a biological relative is unknown | - Retinal hemangioblastoma
With a family history of VHL | Test DNA for the same VHL pathogenic variant as previously identified in an affected biological relative(s) | When the VHL pathogenic variant in a biological relative is unknown | - Pancreatic neuroendocrine tumor
With a family history of VHL | Test DNA for the same VHL pathogenic variant as previously identified in an affected biological relative(s) | When the VHL pathogenic variant in a biological relative is unknown | - Pancreatic cysts and/or cystadenoma
With a family history of VHL | Test DNA for the same VHL pathogenic variant as previously identified in an affected biological relative(s) | When the VHL pathogenic variant in a biological relative is unknown | - Endolymphatic sac tumor
Without a family history of VHL | Genetic test results may be negative if the VHL pathogenic variant occurred postzygotically (e.g., VHL mosaicism) | When the VHL pathogenic variant is unknown or germline negative, but there are clinical signs of VHL | At least one of the following is required for clinical diagnosis:
Without a family history of VHL | Genetic test results may be negative if the VHL pathogenic variant occurred postzygotically (e.g., VHL mosaicism) | When the VHL pathogenic variant is unknown or germline negative, but there are clinical signs of VHL | - CNS hemangioblastoma
Without a family history of VHL | Genetic test results may be negative if the VHL pathogenic variant occurred postzygotically (e.g., VHL mosaicism) | When the VHL pathogenic variant is unknown or germline negative, but there are clinical signs of VHL | - Retinal hemangioblastoma
Without a family history of VHL | Genetic test results may be negative if the VHL pathogenic variant occurred postzygotically (e.g., VHL mosaicism) | When the VHL pathogenic variant is unknown or germline negative, but there are clinical signs of VHL | If only one of the above is present, then one of the following is also required for a clinical diagnosis:
Without a family history of VHL | Genetic test results may be negative if the VHL pathogenic variant occurred postzygotically (e.g., VHL mosaicism) | When the VHL pathogenic variant is unknown or germline negative, but there are clinical signs of VHL | - ccRCC
Without a family history of VHL | Genetic test results may be negative if the VHL pathogenic variant occurred postzygotically (e.g., VHL mosaicism) | When the VHL pathogenic variant is unknown or germline negative, but there are clinical signs of VHL | - PHEO
Without a family history of VHL | Genetic test results may be negative if the VHL pathogenic variant occurred postzygotically (e.g., VHL mosaicism) | When the VHL pathogenic variant is unknown or germline negative, but there are clinical signs of VHL | - Pancreatic cysts and/or cystadenoma
Without a family history of VHL | Genetic test results may be negative if the VHL pathogenic variant occurred postzygotically (e.g., VHL mosaicism) | When the VHL pathogenic variant is unknown or germline negative, but there are clinical signs of VHL | - Endolymphatic sac tumor
Without a family history of VHL | Genetic test results may be negative if the VHL pathogenic variant occurred postzygotically (e.g., VHL mosaicism) | When the VHL pathogenic variant is unknown or germline negative, but there are clinical signs of VHL | - Epididymal or broad ligament cystadenoma

CNS = central nervous system; ccRCC = clear cell renal cell carcinoma; PHEO = pheochromocytoma.

Adapted and updated from Glenn et al.[5] and Pithukpakorn and Glenn.[4]

### Genetic Testing in VHL

It is recommended that at-risk family members be informed that genetic testing for VHL is available. A family member with a clinical diagnosis of VHL, or one who is showing signs/symptoms of VHL, is generally offered genetic testing first. Germline pathogenic variants in VHL are detected in more than 99% of families affected by VHL. Approximately one-third of these families have either a partial or complete deletion of the VHL gene.[6] Extensive examination of a cohort with 71 families who had VHL deletions showed this. Unlike other genes involved in RCC predisposition syndromes like FLCN or FH, there is often a high frequency of Alu repeats near the VHL gene. Alu repeats within the gene are almost always involved in VHL gene deletions, leading to genomic instability. One particular VHL deletion hotspot (at exon 3) was observed in 45% of breakpoints. Whole-genome sequencing may be considered in families who meet clinical criteria for VHL but do not have a detectable VHL pathogenic variant.

Sequence analysis of all three exons detects single nucleotide variants in the VHL gene (~72% of all pathogenic variants).[7] Deletions are detected mainly by using next-generation sequencing (NGS), with confirmation using targeted chromosomal microarray and/or multiplex ligation-dependent probe amplification. Array comparative genomic hybridization is also used to identify genomic imbalances. Anecdotal evidence suggests that NGS may be used for suspected mosaicism cases after receipt of a negative VHL genetic test.[8]

Genetic counseling is provided before genetic testing. Such counseling includes a discussion of the medical, economic, and psychosocial implications for the patient and his/her blood relatives. After genetic counseling occurs, the patient may choose to proceed with genetic testing, after providing informed consent. Additional genetic counseling is given when results are reported to the patient. When a VHL pathogenic variant is identified in a family, biological relatives who test negative for this variant are not carriers of the trait (i.e., they are true negatives) and are not predisposed to VHL manifestations. Moreover, the children of true-negative family members are also not at risk of developing VHL. Clinical testing throughout their lifetimes is, therefore, unnecessary.[4]

### Genetic Diagnosis in VHL

A germline pathogenic variant in the VHL gene is considered a genetic diagnosis.

This finding predisposes an individual to clinical VHL and confers a 50% risk for offspring to inherit the VHL pathogenic variant. Approximately 400 unique pathogenic variants in the VHL gene have been associated with clinical VHL, and their presence verifies the disease-causing capability of the variant. The diagnostic genetic evaluation in a previously untested family generally begins with a clinically diagnosed individual. If a VHL pathogenic variant is identified, that specific pathogenic variant becomes the DNA marker for which other biological relatives are tested. Some individuals may meet VHL clinical criteria for diagnosis but do not test positive for a VHL pathogenic variant. When these individuals also do not have family history of VHL, a de novo pathogenic variant or mosaicism may be present. The latter may be detected by performing genetic testing on other bodily tissues, such as skin fibroblasts or exfoliated buccal cells. For more information, see the De novo pathogenic variants and mosaicism section.

### References

Choyke PL, Glenn GM, Walther MM, et al.: von Hippel-Lindau disease: genetic, clinical, and imaging features. Radiology 194 (3): 629-42, 1995.7862955
Maher ER, Yates JR, Harries R, et al.: Clinical features and natural history of von Hippel-Lindau disease. Q J Med 77 (283): 1151-63, 1990.2274658
Lonser RR, Glenn GM, Walther M, et al.: von Hippel-Lindau disease. Lancet 361 (9374): 2059-67, 2003.12814730
Pithukpakorn M, Glenn G: von Hippel-Lindau syndrome. Community Oncology 1 (4): 232-43, 2004.
Glenn GM, Daniel LN, Choyke P, et al.: Von Hippel-Lindau (VHL) disease: distinct phenotypes suggest more than one mutant allele at the VHL locus. Hum Genet 87 (2): 207-10, 1991.2066108
Vocke CD, Ricketts CJ, Schmidt LS, et al.: Comprehensive characterization of Alu-mediated breakpoints in germline VHL gene deletions and rearrangements in patients from 71 VHL families. Hum Mutat 42 (5): 520-529, 2021.33675279
Stolle C, Glenn G, Zbar B, et al.: Improved detection of germline mutations in the von Hippel-Lindau disease tumor suppressor gene. Hum Mutat 12 (6): 417-23, 1998.9829911
Coppin L, Grutzmacher C, Crépin M, et al.: VHL mosaicism can be detected by clinical next-generation sequencing and is not restricted to patients with a mild phenotype. Eur J Hum Genet 22 (9): 1149-52, 2014.24301059

## Screening for Early Detection of VHL Manifestations

Screening guidelines have been suggested for various manifestations of VHL. In general, these recommendations are based on expert opinion and consensus, but most of these recommendations are not evidence-based. Several VHL screening and surveillance guidelines are available.[1-3] The VHL Alliance's Suggested Active Surveillance Guidelines (https://www.vhl.org/wp-content/uploads/forms/vhla-active-surveillance-guidelines.pdf) is an example of a surveillance plan that is tailored for each individual with VHL.[3] These guidelines are based on a consensus from a panel of experts who work in various disciplines.[4] The modalities in the VHL Alliance's surveillance plan may be used to guide initial clinical diagnostic testing of individuals with suspected VHL (see Table 3). These modalities may also be used for periodic surveillance of at-risk individuals to detect VHL-associated neoplasms at an early stage. Periodic, presymptomatic screening is advised for at-risk individuals, including those who tested positive for a VHL pathogenic variant and those who chose not to be tested for a VHL pathogenic variant but have biological relatives with VHL. The risk of inheriting a VHL pathogenic variant in these individuals may be as high as 50%.

Table 3. Screening Modalities for von Hippel-Lindau Disease (VHL)^a^

Examination/Test | Condition Screened For
History and physical examination^b^ | All conditions listed in this table
Dilated, in-person eye examination with ophthalmoscopy | Retinal hemangioblastoma
Blood pressure and pulse measurements, plasma free metanephrines or fractionated 24-hour urinary free metanephrines test | Pheochromocytoma/paraganglioma
MRI of brain and total spine with and without contrast | CNS hemangioblastoma
MRI of abdomen with and without contrast | Renal cell carcinoma, pheochromocytoma/paraganglioma, pancreatic neuroendocrine tumor/cyst
Audiological exam, MRI of IAC | Endolymphatic sac tumor

CNS = central nervous system; IAC = internal auditory canal; MRI = magnetic resonance imaging.

^a^Adapted from VHL Alliance.[3]

^b^Age-appropriate history and physical examination includes the following: neurological examination, auditory/vestibuloneural questioning and testing, visual symptoms, catecholamine-excess symptom assessment (headaches, palpitations, diaphoresis, hyperactivity, anxiety, polyuria, and abdominal pain).

Level of evidence: 5

### Screening for PHEOs

PHEOs can be detected early when key tests like catecholamine/metanephrine levels and cross-sectional abdominal imaging are done. Most small (≤1 cm) PHEOs can have undetectable levels of catecholamines/metanephrines, and thus, these levels can increase with PHEO tumor progression.[5]

#### Biochemical testing for PHEOs

Biochemical testing is critical when evaluating individuals with VHL, since metabolite levels can often be elevated in the absence of anatomic imaging findings. Assessment begins in childhood, with some guidelines recommending initiation at age 5 years (Table 3). Clinicians have the option of performing plasma testing, urinary testing, or both. Catecholamines levels can vary greatly due to diet and medication use. However, measurement of their metabolites, like metanephrines, is suggested because this has higher performance metrics than that of catecholamines. A fourfold or greater elevation of metanephrines suggests that a PHEO or paraganglioma (PGL) may be present.[6] Individuals with VHL-associated PHEOs often have isolated normetanephrines, whereas PHEOs in other endocrine syndromes show a different functional profile.[7] For more information about biochemical testing for PHEOs, see the Clinical Diagnosis of PHEO and PGL section in Genetics of Endocrine and Neuroendocrine Neoplasias.

#### Imaging for PHEOs

Cross-sectional imaging is initiated early in the second decade of life to evaluate the kidneys, adrenal glands, and pancreas. Both magnetic resonance imaging (MRI) and computed tomography (CT) scans have excellent performance characteristics for detecting PHEOs, with a sensitivity greater than 90%.[8] Additional imaging studies may provide clinical utility when biochemical studies increase clinical suspicion for PHEOs/PGLs but the patient does not have visible lesions. While most tumors that arise from chromaffin tissue in VHL are PHEOs, PGLs can also occur in the chest, abdomen, pelvis, and head/neck.[7] Dedicated cross-sectional imaging can be performed in these areas in addition to whole-body functional imaging. For more information on imaging methods for sporadic and hereditary PHEOs, see the Clinical Diagnosis of PHEO and PGL section in Genetics of Endocrine and Neuroendocrine Neoplasias. Functional imaging studies like scintigraphy (nuclear medicine) or positron emission tomography (PET) scans are useful for locating PHEOs when there is high suspicion and when CT or MRI fails to detect a tumor. Imaging performance can vary based on the tumor's location and genetic background (i.e., the type of hereditary cancer syndrome or genetic variant involved). Iodine I 123 (123I)-metaiodobenzylguanidine scintigraphy coupled with CT imaging provides anatomical and functional information with good sensitivity (80%–90%) and specificity (95%–100%).[9] Other modalities, such as fluorine F 18 (18F)-fluorodopa and 18F-fludeoxyglucose PET/CT, are also useful for tumor localization.[10]

### Screening for Endolymphatic Sac Tumors (ELSTs)

ELSTs can often cause permanent audiovestibular dysfunction. Early identification and treatment of these tumors may decrease morbidity significantly. ELST screening typically includes clinical assessment, audiogram, and imaging. The VHL Alliance's expert consensus guideline on screening recommendations for ELSTs is based on available evidence.[3] Since ELSTs in VHL have an average onset of age 30 years (range, 6–62 y), suggested screening begins at age 11 years. A thorough clinical history can identify patients with common audiovestibular symptoms including tinnitus, vertigo, aural fullness, and hearing loss. Annual clinical assessment is also recommended starting at age 11 years, with additional workup if new symptoms are reported.[11] Diagnostic audiograms can identify hearing loss across various frequencies. Audiograms are recommended every 2 years beginning at age 11 years. However, the specificity for ELST identification is low, since hearing loss is common in the general population. Notably though, hearing loss often occurs at younger ages in patients with VHL who have ELSTs.[12] While rare, the identification of ELSTs prior to imaging have been reported.[11] If clinical symptoms of ELSTs occur or the patient has an abnormal audiogram, further assessment via imaging is recommended. MRI is the mainstay test to identify small ELSTs. While an MRI of the brain is useful, a thin-cut MRI scan of the inner auditory canal (IAC) can identify lesions as small as 2 mm in size and has high diagnostic specificity.[13] Intralabyrinthine hemorrhage, hydrops, and soft tissue enhancement are typical findings associated with ELSTs. A baseline MRI of the IAC is suggested between ages 15 to 20 years to assess anatomy.[11] Particular attention to the inner ear is recommended on routine brain imaging as part of hemangioblastoma assessments. A thin-slice CT of the temporal bone is another useful modality for ELST confirmation. While this screening modality can aid in preoperative planning, it does have the inherent risks of radiation. Screening for ELSTs beyond age 65 years has questionable benefit, since there have been no reports of patients with ELSTs beyond age 62 years.

### References

Wolters WPG, Dreijerink KMA, Giles RH, et al.: Multidisciplinary integrated care pathway for von Hippel-Lindau disease. Cancer 128 (15): 2871-2879, 2022.35579632
Binderup MLM, Smerdel M, Borgwadt L, et al.: von Hippel-Lindau disease: Updated guideline for diagnosis and surveillance. Eur J Med Genet 65 (8): 104538, 2022.35709961
VHL Alliance: VHLA Suggested Active Surveillance Guidelines. Boston, MA: VHL Alliance, 2020. Available online (https://www.vhl.org/wp-content/uploads/forms/vhla-active-surveillance-guidelines.pdf). Last accessed October 22, 2024.
Daniels AB, Tirosh A, Huntoon K, et al.: Guidelines for surveillance of patients with von Hippel-Lindau disease: Consensus statement of the International VHL Surveillance Guidelines Consortium and VHL Alliance. Cancer 129 (19): 2927-2940, 2023.37337409
Sanford T, Gomella PT, Siddiqui R, et al.: Long term outcomes for patients with von Hippel-Lindau and Pheochromocytoma: defining the role of active surveillance. Urol Oncol 39 (2): 134.e1-134.e8, 2021.33303379
Neary NM, King KS, Pacak K: Drugs and pheochromocytoma--don't be fooled by every elevated metanephrine. N Engl J Med 364 (23): 2268-70, 2011.21651412
Shuch B, Ricketts CJ, Metwalli AR, et al.: The genetic basis of pheochromocytoma and paraganglioma: implications for management. Urology 83 (6): 1225-32, 2014.24642075
Čtvrtlík F, Koranda P, Schovánek J, et al.: Current diagnostic imaging of pheochromocytomas and implications for therapeutic strategy. Exp Ther Med 15 (4): 3151-3160, 2018.29545830
Ilias I, Pacak K: Current approaches and recommended algorithm for the diagnostic localization of pheochromocytoma. J Clin Endocrinol Metab 89 (2): 479-91, 2004.14764749
Ilias I, Meristoudis G: Functional Imaging of Paragangliomas with an Emphasis on Von Hippel-Lindau-Associated Disease: A Mini Review. J Kidney Cancer VHL 4 (3): 30-36, 2017.28890865
Mehta GU, Kim HJ, Gidley PW, et al.: Endolymphatic Sac Tumor Screening and Diagnosis in von Hippel-Lindau Disease: A Consensus Statement. J Neurol Surg B Skull Base 83 (Suppl 2): e225-e231, 2022.35833006
Poulsen ML, Gimsing S, Kosteljanetz M, et al.: von Hippel-Lindau disease: surveillance strategy for endolymphatic sac tumors. Genet Med 13 (12): 1032-41, 2011.21912262
Butman JA, Nduom E, Kim HJ, et al.: Imaging detection of endolymphatic sac tumor-associated hydrops. J Neurosurg 119 (2): 406-11, 2013.23472846

## Management of Disease Manifestations

### Management of Renal Tumors

#### Surgical interventions for renal tumors

The management of von Hippel-Lindau disease (VHL) has changed significantly as clinicians have learned how to balance the risk of cancer spread while minimizing renal morbidity. Some initial surgical series performed bilateral radical nephrectomies for renal tumors followed by renal transplant.[1,2] While rare, some patients with VHL undergo repeated kidney surgeries, which eventually make them dependent on renal replacement therapy. Renal transplants appear safe in patients with VHL, with adequate graft survival outcomes.[3] However, preserving the kidneys has become a priority during these procedures. Nephron-sparing surgery (NSS) was introduced in the 1980s for VHL after several groups demonstrated that this method conferred a low risk of cancer spread using a less radical surgical approach.[4,5] In 1995, a large multi-institutional series demonstrated how NSS could produce excellent cancer-specific survival in patients with renal cell carcinoma (RCC).[6] Because of multiple reports of excellent outcomes, NSS is now considered the surgical standard of care for VHL-associated RCCs when technically feasible. Over time, NSS techniques have been refined for patients with VHL to minimize damage to the adjacent normal parenchyma. For example, in traditional NSS, a wide margin of tissue is taken. However, in a subsequent type of NSS called enucleation, much of the adjacent normal parenchyma can be preserved.[7]

Patients with VHL can have dozens of renal tumors. Therefore, resection of all evident renal disease may not be feasible. To minimize the morbidity of multiple surgical procedures, loss of kidney function, and the risk of distant progression, a method to balance overtreatment and undertreatment was sought. The National Cancer Institute (NCI) evaluated a specific tumor-size threshold to trigger surgical intervention. An evaluation of 52 patients with VHL or hereditary papillary renal carcinoma who were treated when their largest solid renal lesion reached 3 cm demonstrated no evidence of distant metastases or the need for renal replacement therapy after a median follow-up period of 60 months.[8] Subsequent retrospective series reinforced the importance of this 3-cm tumor-size threshold. For example, in one study, none of the 108 patients with VHL showed evidence of distant metastases when renal tumors were managed at sizes of 3 cm or smaller.[9] In patients with tumors larger than 3 cm, 27.3% (20 of 73) developed distant recurrences.[9] This 3-cm tumor-size threshold is now widely used in the United States to trigger surgical intervention for VHL-associated clear cell renal cell carcinomas (ccRCCs). However, some international research groups have published data that support active surveillance of renal tumors until they reach 4 cm.[10-13] When surgery is performed on a patient with VHL, resection of as many renal tumors as is clinically feasible may delay the need for further surgical interventions.[14] The use of intraoperative ultrasound is helpful to identify and remove smaller lesions.[15]

Many patients with VHL develop new RCCs on an ongoing basis and may require further intervention. Adhesions and perinephric scarring make subsequent surgical procedures more challenging. While a radical nephrectomy could be considered, NSS remains the preferred approach, when feasible. While there may be a higher incidence of complications, repeat and salvage NSS can enable patients to maintain excellent renal function and provide promising oncological outcomes at the time of intermediate follow-up.[16,17] These surgeries may be handled best by specialized centers with significant experience managing individuals with hereditary forms of kidney cancer.[18]

Level of evidence: 3di

#### Ablative techniques for renal tumors

Thermal ablative techniques apply extreme heat or cold to a mass to destroy it. Cryoablation (CA) and radiofrequency ablation (RFA) were introduced in the late 1990s to manage small renal masses.[19,20] For sporadic renal masses, both thermal ablative techniques achieved a recurrence-free survival rate of nearly 90%, leading the American Urologic Association to recommend discussing this technique with high-risk patients who have small renal masses (≤4 cm).[21] For patients with VHL, the clinical applications of ablative techniques are still not clearly defined, and surgery remains the most-studied intervention. Ablative techniques were introduced to VHL-associated RCC management in a phase II trial investigating the effects of ablation at the time of lesion resection. In this study, 11 tumors were treated, and an intra-operative ultrasound showed complete elimination of blood flow to the tumors. On final pathology, there was evidence of treatment effect on all tumors.[22] Since that time, some centers have successfully used thermal ablative techniques for primary and salvage management in patients with VHL.[23] Other centers have found that techniques such as RFA have a high failure rate and should be reserved for patients with marginal renal function.[24] Despite limited long-term data, these techniques have been increasingly used to treat RCC in patients with VHL.[25,26] A single-institution study evaluated treatment trends in RCC in 113 patients with VHL. Between 2004 and 2009, 43% of cases were managed with RFA.[26]

Thermal ablation may play an increasing role as salvage therapy for individuals with a high risk of morbidity from surgery. CA was evaluated as a salvage therapy in 14 patients to avoid the morbidity associated with repeated NSS. Results showed minimal change in renal function after treatment with CA. There was suspicion of recurrence in only 4 of 33 tumors (12.1%) after a median follow-up period of 37 months.[27] However, surgery after thermal ablation is challenging, with a significantly higher rate of postoperative complications due to adhesions and scarring, especially along the tract of the ablative probes.[28- 30] Clinicians must consider how thermal ablation could impact future RCC management in younger individuals, who may need further surgical management in their lifetimes.[18,31]

In summary, the clinical applications of ablative techniques are not clearly defined in VHL, and surgery remains the most-studied intervention. The available clinical evidence suggests that ablative approaches are only recommended for small (≤3 cm), solid-enhancing renal masses in older patients with high operative risk—especially those facing salvage renal surgery because of a high complication rate. Young age, tumors larger than 4 cm, hilar tumors, and cystic lesions are relative contraindications for thermal ablation.[32,33]

Level of evidence: 3di

### Management of Pheochromocytomas (PHEOs)

#### Surveillance of PHEOs

PHEOs can be a significant source of morbidity in patients with VHL because excess catecholamines can cause significant cardiovascular effects.[34] Many small, asymptomatic PHEOs (≤2 cm) can be safely observed because they have very slow rates of growth and progression. However, because PHEOs in individuals with VHL can become malignant (5%–10% ultimately metastasize), it is imperative that surveillance be performed with very close monitoring to ensure that there is sufficient time to intervene. Since partial adrenalectomy is the best surgical option for smaller PHEOs, the size and anatomical location of PHEOs should be considered when electing surveillance. Special considerations may be needed for patients undergoing future surgeries or childbirth. When a preoperative alpha blockade is not used in patients with a PHEO, these patients can experience a massive release of catecholamines, which can lead to hemodynamic instability.

#### Surgical interventions for PHEOs

Surgical resection is an important tool for managing PHEOs in individuals with VHL. It is important that all patients have detailed endocrine evaluations and preoperative alpha-blockades before surgical resection of PHEOs. Medications are often initiated and carefully titrated prior to surgery to prevent potentially life-threatening cardiovascular complications. For more information, see the Preoperative management section in Genetics of Endocrine and Neuroendocrine Neoplasias.

PHEOs in patients with VHL may be managed differently than in individuals with sporadic PHEOs or other hereditary cancer syndromes. Since PHEOs are multifocal and bilateral in individuals with VHL nearly 50% of the time, many patients have undergone bilateral adrenalectomy and have required lifelong steroid replacement.[35] The morbidity associated with adrenal replacement and the development of Cushing syndrome in individuals with VHL heightened interest in cortical-sparing partial adrenalectomy. Even after extensive adrenal mobilization and tumor resection, the adrenal gland has extensive collateral arterial supply and venous drainage that can permit organ survival.[36] Leaving at least 15% to 30% of residual adrenal gland volume is necessary to allow sufficient hormone production.[37] Most adrenal glands will maintain functional cortisol production after cortical-sparing partial adrenalectomy is performed with modern techniques. In a solitary adrenal gland, a series demonstrated that only 1 of 13 (8%) patients required lifelong steroid replacement.[38]

The possibility of partial adrenalectomy leaving residual cancer behind is a concern in patients with a malignant PHEO. However, in the VHL population, the malignancy rate of PHEOs is low (<5%).[39] The local recurrence rate of PHEOs after partial adrenalectomy also appears to be low (0%–33%). Therefore, when feasible and safe from an oncological perspective, most guidelines recommend partial adrenalectomy for managing PHEOs in patients with VHL.

In a total adrenalectomy, the adrenal vein is usually divided early to limit catecholamine release during gland mobilization. However, in a partial adrenalectomy, dividing the adrenal vein can lead to venous congestion and gland compromise.[40] In a patient with an effective preoperative catecholamine block, it may be possible to only clamp the adrenal vein during the resection and unclamp it after tumor excision. The optimal amount of adjacent normal parenchyma to remove is unclear. Initial surgical approaches for partial adrenalectomy in patients with tumors in the tail/head of the adrenal gland included removing this portion of the gland. However, when patients had tumors in the body of the adrenal gland, this region was resected along with a thin rim of normal parenchyma. As data have clarified the risk of malignancy and local recurrence of PHEOs in patients with VHL, a technique involving an enucleating resection of the tumor pseudocapsule has been described (which is similar to renal tumor enucleation techniques). This approach may preserve the maximum amount of cortical tissue and limit vascular compromise to the residual adrenal gland.[35] However, concerns over a higher rate of local recurrence may limit use of this approach.

Both open resection and laparoscopic surgical approaches are safe, but if feasible, laparoscopic removal of adrenal tissue is preferred.[41,42] Means of exposure and approach are based on the anatomical location of the tumor. Direct access to the adrenal gland and para-aortic region can be achieved with the posterior approach, which is direct, safe, and efficient.[43] Adequate exposure of the complete tumor is important for total removal. Robotic assistance can be used in select cases because it offers a three-dimensional, magnified view of the tumor's anatomy.[44] When an individual has a history of multiple abdominal procedures, a minimally invasive approach is often not feasible because of adhesions. Open resection is commonly recommended for patients with large adrenal tumors because laparoscopy is difficult to perform within a confined space and increases risk of complications. For more information about surgical approaches for PHEOs, see the Surgery section in Genetics of Endocrine and Neuroendocrine Neoplasias.

### Management of Pancreatic Manifestations

VHL-related tumors, such as pancreatic neuroendocrine tumors (NETs), may be identified during incidental imaging or lifelong surveillance protocols.[45,46] The clinical characteristics of the pancreatic lesions (i.e., cystic vs. solid, symptomatic vs. asymptomatic, size) determine whether patients are eligible for conservative management with imaging surveillance or whether they require surgical intervention.[47]

#### Workup and imaging for pancreatic manifestations

Pancreatic cysts are benign and rarely require intervention. Pancreatic cysts in VHL do not show enhancement on imaging and do not have malignant potential, regardless of size. Diffuse cystic disease of the pancreas rarely affects endocrine function. Infrequently, cystic replacement of the normal pancreas can lead to a loss of exocrine function. When bloating, cramping, diarrhea, or abdominal pain occurs with fatty meals, enzymatic studies on the stool could be employed to determine if exocrine supplementation is indicated. Solid or mixed pancreatic lesions require specialized evaluation and treatment because they may be cystadenomas or pancreatic NETs. Most pancreatic NETs are nonfunctional, but laboratory evaluation with biochemical markers, such as chromogranin A, could be considered during the workup or follow-up. Imaging evaluation with a contrast-enhanced computed tomography (CT) or magnetic resonance imaging (MRI) are both excellent modalities to characterize pancreatic lesions. Gallium Ga 68-DOTATATE positron emission tomography (PET)/CT has also been used to detect VHL-associated tumors.[48] The performance metrics may depend on the lesion size and optimization of contrast administration timing. When cross-sectional imaging is inconclusive, functional imaging with nuclear medicine modalities may be useful to help diagnose metastatic disease or distinguish solid microcystic adenomas from solid pancreatic NETs.[49] Endoscopic ultrasound is a highly sensitive modality. This procedure may be offered when intravenous contrast cannot be given or when there is concern that a lesion may be a solid microcystic serous adenoma, rather than a cancer. Tissue sampling can be performed during an endoscopic procedure, but it is rarely indicated.

#### Surveillance of pancreatic manifestations

Serous cystadenomas do not have malignant potential and can be safely observed. Local obstruction of the bile duct or the pancreatic duct occur rarely with these lesions. Solid pancreatic NETs have a low metastatic potential. If they are localized, small, and asymptomatic, they can be safely observed without concerns. The duration and modality for pancreatic imaging is center-dependent, but general principles include performing imaging every 1 to 2 years with the same examination method to allow meaningful comparisons. Pancreatic lesions with slow doubling times, sizes less than 3 cm, and a lack of exon 3 pathogenic variants have the most favorable outcomes.[50] In a review of 175 VHL patients with pancreatic NETs, patients with tumors less than 1.2 cm in diameter did not develop metastases or need surgeries.[51] Patients with larger tumors (1.2–3.0 cm in diameter) and a missense variant in VHL, as opposed to other variant types, were more likely to develop metastases or require surgical invention. Tumor size, variant type, and exon location may eventually play a role in determining surveillance in patients with VHL.

#### Surgical interventions for pancreatic manifestations

Pancreatic cysts rarely need surgical intervention except when they exert a mass effect. Aspiration or decortication can be considered in these rare cases. Indications for surgery on pancreatic NETs can vary, but intervention is offered to lower the risk of dissemination. A review of the natural history of pancreatic NETs shows that these tumors may demonstrate nonlinear growth characteristics.[52] Pancreatic NETs are typically resected if they are 3 cm or larger (or ≥2 cm if the tumor is located in the head of the pancreas).[53] Tumor enucleation is safe and effective if the lesion is not located near the pancreatic duct. If it is not safe to enucleate a lesion, a distal pancreatectomy is performed. Tumors in the head of the pancreas that are 2 cm or larger are also evaluated for resection, since larger lesions in this location are more challenging to enucleate. If the lesion is located too close to the pancreatic duct, a Whipple procedure is offered. For rare situations involving large multifocal lesions, a total pancreatectomy could be considered. After surgery, if patients develop exocrine dysfunction, enzyme supplementation may improve gastrointestinal symptoms and nutritional status.

Positive lymph nodes should be removed if they are found during surgery. Surgery is still considered for individuals with locally advanced or metastatic pancreatic NETs if significant debulking can be offered. Additionally, metastatic liver lesions can often be treated with local ablative techniques or resection in select patients with VHL.

### Management of Retinal Hemangioblastomas

#### Interventions for retinal hemangioblastomas

Treatment of retinal hemangioblastomas includes laser treatment, photodynamic therapy, and vitrectomy. Efforts have also been made to use either local or systemic therapy.

##### Laser photocoagulation

Laser photocoagulation is used extensively to treat retinal hemangioblastomas in patients with VHL. A retrospective review of 304 treated retinal hemangioblastomas in 100 eyes showed that laser photocoagulation had a control rate greater than 90% and was most effective in smaller lesions up to 1 disk diameter.[54]

##### Vitrectomy and retinectomy

Twenty-one patients with severe retinal detachment achieved varying degrees of visual preservation when treated with pars plana vitrectomy with posterior hyaloid detachment, epiretinal membrane dissection, and silicone oil/gas injection with retinectomy or photocoagulation/cryotherapy to remove the retinal hemangioblastoma.[55] Pars plana vitrectomy was shown to improve or preserve visual function in 23 patients with advanced VHL eye disease.[56] However, postoperative progression of ocular VHL disease was possibly accelerated in cases where a retinotomy was performed.

##### Photodynamic therapy

Photodynamic therapy reduced macular edema in a case series of two patients with bilateral retinal hemangioblastomas.[57] These patients had minimal benefit, with little to no increase in visual acuity. In a second series of five patients, including four with VHL disease, photodynamic therapy was performed on six eyes.[58] This therapy resulted in tumor regression/stabilization and a decrease in the amount of subretinal fluid and lipid exudates in all patients. However, stabilization or improvement of visual acuity was observed in only 50% of cases.

##### Intravitreal treatment

Intravitreal treatment with bevacizumab resulted in stabilization of retinal capillary hemangioblastomas for over 2 years in one case report [59] and vision improvement in one of five eyes in a second case report.[60] Intravitreal ranibizumab did not provide consistent benefit in a case series of five patients.[61] Systemic bevacizumab provided marginal benefit in individual case reports.[62,63] Treatment with sunitinib resulted in possible visual stabilization in three patients but with significant concomitant toxicity.[64]

##### Proton therapy

In a case study in which proton therapy was used on eight eyes (in eight patients), macular edema was resolved in seven of eight patients. All treated eyes had vision preserved after a median follow-up period of 84 months.[65]

### Management of Central Nervous System (CNS) Hemangioblastomas

#### Surveillance of CNS hemangioblastomas

Many small lesions are found incidentally with screening, and patients may remain asymptomatic for a long time. In a study with a short-term follow-up period, 35.5% to 51% of CNS hemangioblastomas remained stable.[66]

In a National Institutes of Health series, researchers noted that patterns of growth for CNS hemangioblastomas can vary, with saltatory growth patterns occurring most often (72%).[67] Other growth patterns, such as linear growth (6%) and exponential growth (22%), were also observed. Determinants of growth have been assessed. Lesion location may matter, since cerebellar and brain stem lesions grow faster than those in the spinal cord or cauda equina.[67] Approximately 12% of patients with hemangioblastomas developed peritumoral or intratumoral cysts, and 6.4% of these individuals were symptomatic and required treatment. Increased tumor burden or total tumor number detected was associated with male sex, longer follow-up time, and genotype (all P < .01). Partial germline deletions were associated with more tumors per patient than missense variants (P < .01). Other interesting findings were observed, including an increased number of tumors per year in young patients and an increased tumor growth rate in men (P < .01).

Another small series (n = 52) aimed to evaluate growth rates of CNS hemangioblastomas under surveillance. Researchers found that symptomatic presentation was the only independent predictor of growth.[66] Since most CNS hemangioblastomas eventually grew and became symptomatic, the rate of treatment also increased, with the rates of intervention at 1, 3, and 7 years reaching 11.5%, 50.1%, and 73%, respectively.

#### Surgical interventions for CNS hemangioblastomas

Surgical resection of cerebellar or spinal hemangioblastomas has been the standard treatment approach. While surgical resection of tumors is generally performed before the onset of neurological symptoms,[68] this varies by center and may be influenced by factors like edema, tumor location, hydrocephalus, and the tumor's growth rate. Spinal lesions are often approached posteriorly and require a laminectomy. Because patients often require multiple operations during their lifetimes, removal of support can lead to progressive spinal instability requiring stabilization/fusion.[69] For cerebellar lesions, the surgical approach depends on the lateral orientation of the tumor, but many can be approached through a midline suboccipital incision. Preoperative embolization can be performed to reduce bleeding, but this approach depends on the surgeon's preference.[70]

#### Radiation therapy for CNS hemangioblastomas

Because patients may have multiple tumors and require several surgical procedures, external beam radiation therapy has emerged as an alternative when surgical resection is not feasible. Stereotactic radiosurgery is a commonly used approach for hemangioblastoma treatment.[71] Retrospective series have demonstrated that radiosurgery was associated with a size reduction in more than 50% of treated lesions, with a low complication rate.[71] A prospective study at the NCI evaluated local control of treated lesions. Long-term series may be necessary to assess the effectiveness of radiosurgery, since tumors can have a saltatory growth pattern. In this series, 33% of treated subcentimeter, asymptomatic tumors progressed during follow-up. Because of concerns about long-term local control, the authors concluded that stereotactic radiosurgery should be reserved for the treatment of tumors not amenable to surgical resection.[72] Other series have shown better outcomes.[73] However, it is unclear if this depends on the definition of local control, which varies across studies.

### Management of Endolymphatic Sac Tumors (ELSTs)

There are limited data on the management of ELSTs, consisting largely of case series detailing surgical management of sporadic and VHL-associated tumors. Because audiovestibular compromise is not dependent on tumor size and can occur with small tumors, early intervention is generally preferred. Early intervention may also minimize the risk of invasion into surrounding structures and increase the probability of complete resection. A meta-analysis assessed outcomes from 82 studies that treated 252 tumors.[74] A limited number of patients were observed, and nearly all of them showed clinical progression, which argues against this approach. Surgery has been the main treatment for ELSTs, with complete resection the optimal choice to avoid recurrence. Preoperative embolization has been performed to reduce the risk of perioperative morbidity and hemorrhage. The surgical approach often depends on a surgeon's preference, tumor location, and the patient's baseline hearing status. Complete resection of all disease is not always feasible due to tumor extension and invasion into surrounding structures. Thus, recurrence rates for ELSTs after surgery are high (16%). While radiation is not usually a primary treatment option, it is often performed as adjuvant treatment. Data are limited on systemic therapy approaches for ELSTs.

### VHL-Specific Systemic Therapy for Localized Disease

Patients with VHL often require multiple local treatments for their disease manifestations. Recurrent surgical intervention contributes to morbidity and can often cause irreversible damage to affected organs. Permanent loss of function can occur in the following organs:

- Visual impairment (retina).
- Chronic kidney disease (kidney).
- Adrenal insufficiency (adrenal glands).
- Diabetes and pancreatic exocrine deficiency (pancreas).
- Neurological complications such as motor or sensory deficits (brain and spine).

Researchers have sought a systemic therapy that can reduce or eliminate the need for local interventions. Understanding the biology of VHL has led to the development of targeted therapies that interfere with the downstream signaling cascade associated with tumorigenesis.[75] Effective agents that target the VHL–hypoxia-inducible factor (HIF) pathway were developed to treat patients with advanced, sporadic ccRCCs. Afterward, the clinical utility of these agents was investigated in individuals with VHL who had various VHL-related manifestations.

Initial research on tanespimycin (17-AAG) therapy highlighted that some patients may not prefer intravenous administration of medication. The modest toxicity and poor tolerability associated with 17-AAG may deter healthy patients (with other surgical options) from using this treatment.[76] Subsequently, a variety of agents targeting the vascular endothelial growth factor (VEGF) pathway have been evaluated. Most of these agents demonstrated activity against renal tumors but only modest or absent activity against CNS hemangioblastomas, pancreatic neuroendocrine tumors, and other VHL-related manifestations. A first-generation tyrosine kinase inhibitor, sunitinib, was given to patients with VHL for up to four cycles (4 weeks on, then 2 weeks off). This drug was first explored in a cohort of 15 participants with various VHL-associated manifestations, all of whom did not need immediate medical intervention.[77] While tumors did not enlarge in these individuals (>90% of participants), toxicity (including fatigue) led to frequent sunitinib dose reductions in 10 of 15 participants. The overall response rate (ORR) was 33% (6 of 18 tumors) in localized renal tumors, demonstrating the potential for sunitinib therapy to influence the need for local intervention. Unfortunately, responses (as defined by Response Evaluation Criteria In Solid Tumors [RECIST]) were not observed in CNS hemangioblastomas. In a retrospective review of 14 patients who had received sunitinib, responses were not seen in 11 patients with cerebellar hemangioblastomas and 8 patients with spinal hemangioblastomas.[78] Vandetanib (https://ascopubs.org/doi/10.1200/jco.2013.31.15_suppl.4584), a tyrosine kinase inhibitor with a broad target specificity (including vascular endothelial growth factor receptor [VEGFR] and epidermal growth factor receptor [EGFR]), was evaluated in a phase II study of 37 patients. In this study, vandetanib was associated with limited activity and toxicity, which required frequent treatment interruptions and dose reductions.[79] Pazopanib, a second-generation tyrosine kinase inhibitor with a better toxicity profile than sunitinib, was similarly studied in patients with VHL.[80] A cohort of 31 patients was treated with pazopanib for 24 weeks with an option to continue this therapy. Responses (as defined by RECIST) were observed in 52% of renal tumors and 53% of pancreatic lesions. Both malignant pancreatic NETs and benign pancreatic serous cystadenomas were included in this study. However, there was little activity against CNS hemangioblastomas with an ORR of 4%. Pazopanib was also poorly tolerated, with only 23% of participants choosing to continue treatment beyond the initial 24-week period.

While anti-VEGF therapy is administered systemically for most VHL-associated neoplasms, in VHL-associated retinal tumors, it can be delivered directly into the eye. Intravitreally-administered pegaptanib (an anti-VEGF therapy) was evaluated in five patients with VHL-associated retinal hemangioblastomas.[81] Only two patients were able to complete the pegaptanib therapy, and responses were not seen in the patients' primary tumors. Two patients had decreased retinal thickening and a reduced number of hard exudates. Although the U.S. Food and Drug Administration has approved pegaptanib to treat macular degeneration, it is not approved for the treatment of VHL-associated retinal lesions.

Research targeting downstream consequences of HIF upregulation (due to inactivation of the VHL gene) have had only modest success. Hence, recent efforts have focused on targeting direct consequences of VHL loss. Multiple studies have demonstrated that multiple HIF molecules differentially regulate tumorigenesis, with HIF2 being the most critical mediator.[82] This transcription factor became a promising target for treatment, but this only became possible when a new class of agents was developed that can selectively inhibit HIF2-alpha. These agents were designed to fit in the binding pocket of HIF2-alpha's Per-ARNT-SIM (PAS)-B domain. This prevented HIF1-beta/ARNT dimerization and showed activity in laboratory models.[83] This finding ultimately led to the development of belzutifan, an oral agent that was studied in an international phase II study of 61 participants with VHL-associated RCC across 11 centers.[84] Unlike agents targeting the VEGF pathway, belzutifan was well-tolerated in participants and had a low rate of high-grade toxicity. The most common grade 3 adverse event was anemia (8% of patients), and most patients remained on belzutifan after this paper was published (median follow-up period, 21.8 mo). Responses were observed in 49% of renal tumors, 77% of pancreatic tumors, and 30% of CNS tumors. All retinal tumors (16/16) improved after belzutifan treatment. The FDA approved belzutifan for VHL-associated renal, pancreatic, and CNS hemangioblastomas that do not require immediate surgical intervention, based on activity and tolerability measurements from the trial. Additional research is expected to reveal the long-term efficacy and toxicity of this agent. Belzutifan is now used as an adjunct to surgical management in patients with VHL-associated tumors that are confined to an organ. It is unclear how belzutifan will be used in clinical practice and which providers will prescribe it to patients.[76]

### VHL Management During Pregnancy

Two studies have examined the effect of pregnancy on hemangioblastoma progression in patients with VHL.[85,86] One study retrospectively examined the records of 29 patients with VHL from the Netherlands who became pregnant 48 times (49 newborns) between 1966 and 2010 (40% became pregnant before 1990). Imaging records were available for 31% of the pregnancies. Researchers reported that 17% of all pregnancies had VHL-related complications, including three patients with craniospinal hemangioblastomas in whom the progression score of the tumors changed significantly (P = .049) before and after pregnancy.[85] However, findings from this study contrast those reported from a small, prospective investigation.[86] Until a large-scale, international, prospective study is conducted, these investigations suggest using a conservative approach that includes medical surveillance during pregnancy.

### References

Goldfarb DA, Neumann HP, Penn I, et al.: Results of renal transplantation in patients with renal cell carcinoma and von Hippel-Lindau disease. Transplantation 64 (12): 1726-9, 1997.9422410
Fetner CD, Barilla DE, Scott T, et al.: Bilateral renal cell carcinoma in von Hippel-Lindau syndrome: treatment with staged bilateral nephrectomy and hemodialysis. J Urol 117 (4): 534-6, 1977.850326
Antony MB, Rompré-Brodeur A, Chaurasia A, et al.: Outcomes of and indications for renal transplantation in patients with von Hippel Lindau disease. Urol Oncol 41 (12): 487.e1-487.e6, 2023.37778955
Pearson JC, Weiss J, Tanagho EA: A plea for conservation of kidney in renal adenocarcinoma associated with von Hippel-Lindau disease. J Urol 124 (6): 910-2, 1980.7441848
Loughlin KR, Gittes RF: Urological management of patients with von Hippel-Lindau's disease. J Urol 136 (4): 789-91, 1986.3761431
Steinbach F, Novick AC, Zincke H, et al.: Treatment of renal cell carcinoma in von Hippel-Lindau disease: a multicenter study. J Urol 153 (6): 1812-6, 1995.7752324
Walther MM, Thompson N, Linehan W: Enucleation procedures in patients with multiple hereditary renal tumors. World J Urol 13 (4): 248-50, 1995.8528301
Walther MM, Choyke PL, Glenn G, et al.: Renal cancer in families with hereditary renal cancer: prospective analysis of a tumor size threshold for renal parenchymal sparing surgery. J Urol 161 (5): 1475-9, 1999.10210376
Duffey BG, Choyke PL, Glenn G, et al.: The relationship between renal tumor size and metastases in patients with von Hippel-Lindau disease. J Urol 172 (1): 63-5, 2004.15201738
Peng X, Chen J, Wang J, et al.: Natural history of renal tumours in von Hippel-Lindau disease: a large retrospective study of Chinese patients. J Med Genet 56 (6): 380-387, 2019.30745424
Zhang J, Pan JH, Dong BJ, et al.: Active surveillance of renal masses in von Hippel-Lindau disease: growth rates and clinical outcome over a median follow-up period of 56 months. Fam Cancer 11 (2): 209-14, 2012.22203439
Jilg CA, Neumann HP, Gläsker S, et al.: Growth kinetics in von Hippel-Lindau-associated renal cell carcinoma. Urol Int 88 (1): 71-8, 2012.22156657
Neumann HP, Bender BU, Berger DP, et al.: Prevalence, morphology and biology of renal cell carcinoma in von Hippel-Lindau disease compared to sporadic renal cell carcinoma. J Urol 160 (4): 1248-54, 1998.9751329
Fadahunsi AT, Sanford T, Linehan WM, et al.: Feasibility and outcomes of partial nephrectomy for resection of at least 20 tumors in a single renal unit. J Urol 185 (1): 49-53, 2011.21074206
Choyke PL, Pavlovich CP, Daryanani KD, et al.: Intraoperative ultrasound during renal parenchymal sparing surgery for hereditary renal cancers: a 10-year experience. J Urol 165 (2): 397-400, 2001.11176381 21105025
Bratslavsky G, Liu JJ, Johnson AD, et al.: Salvage partial nephrectomy for hereditary renal cancer: feasibility and outcomes. J Urol 179 (1): 67-70, 2008.17997447
Johnson A, Sudarshan S, Liu J, et al.: Feasibility and outcomes of repeat partial nephrectomy. J Urol 180 (1): 89-93; discussion 93, 2008.18485404
Shuch B, Linehan WM, Bratslavsky G: Repeat partial nephrectomy: surgical, functional and oncological outcomes. Curr Opin Urol 21 (5): 368-75, 2011.21788903
Gill IS, Novick AC, Soble JJ, et al.: Laparoscopic renal cryoablation: initial clinical series. Urology 52 (4): 543-51, 1998.9763069
McGovern FJ, Wood BJ, Goldberg SN, et al.: Radio frequency ablation of renal cell carcinoma via image guided needle electrodes. J Urol 161 (2): 599-600, 1999.9915457
Campbell SC, Novick AC, Belldegrun A, et al.: Guideline for management of the clinical T1 renal mass. J Urol 182 (4): 1271-9, 2009.19683266
Walther MC, Shawker TH, Libutti SK, et al.: A phase 2 study of radio frequency interstitial tissue ablation of localized renal tumors. J Urol 163 (5): 1424-7, 2000.10751849 20216999
Shingleton WB, Sewell PE: Percutaneous renal cryoablation of renal tumors in patients with von Hippel-Lindau disease. J Urol 167 (3): 1268-70, 2002.11832711
Park BK, Kim CK: Percutaneous radio frequency ablation of renal tumors in patients with von Hippel-Lindau disease: preliminary results. J Urol 183 (5): 1703-7, 2010.20299060
Chan VW, Lenton J, Smith J, et al.: Multimodal image-guided ablation on management of renal cancer in Von-Hippel-Lindau syndrome patients from 2004 to 2021 at a specialist centre: A longitudinal observational study. Eur J Surg Oncol 48 (3): 672-679, 2022.34728141
Joly D, Méjean A, Corréas JM, et al.: Progress in nephron sparing therapy for renal cell carcinoma and von Hippel-Lindau disease. J Urol 185 (6): 2056-60, 2011.21496837
Yang B, Autorino R, Remer EM, et al.: Probe ablation as salvage therapy for renal tumors in von Hippel-Lindau patients: the Cleveland Clinic experience with 3 years follow-up. Urol Oncol 31 (5): 686-92, 2013.21723752
Nguyen CT, Lane BR, Kaouk JH, et al.: Surgical salvage of renal cell carcinoma recurrence after thermal ablative therapy. J Urol 180 (1): 104-9; discussion 109, 2008.18485401
Karam JA, Wood CG, Compton ZR, et al.: Salvage surgery after energy ablation for renal masses. BJU Int 115 (1): 74-80, 2015.24656119
Kowalczyk KJ, Hooper HB, Linehan WM, et al.: Partial nephrectomy after previous radio frequency ablation: the National Cancer Institute experience. J Urol 182 (5): 2158-63, 2009.19758659
Shuch B, Singer EA, Bratslavsky G: The surgical approach to multifocal renal cancers: hereditary syndromes, ipsilateral multifocality, and bilateral tumors. Urol Clin North Am 39 (2): 133-48, v, 2012.22487757
Dominguez-Escrig JL, Sahadevan K, Johnson P: Cryoablation for small renal masses. Adv Urol : 479495, 2008.18645622
Aron M, Gill IS: Minimally invasive nephron-sparing surgery (MINSS) for renal tumours. Part II: probe ablative therapy. Eur Urol 51 (2): 348-57, 2007.17084513
Sanford T, Gomella PT, Siddiqui R, et al.: Long term outcomes for patients with von Hippel-Lindau and Pheochromocytoma: defining the role of active surveillance. Urol Oncol 39 (2): 134.e1-134.e8, 2021.33303379
Benhammou JN, Boris RS, Pacak K, et al.: Functional and oncologic outcomes of partial adrenalectomy for pheochromocytoma in patients with von Hippel-Lindau syndrome after at least 5 years of followup. J Urol 184 (5): 1855-9, 2010.20846682
Baghai M, Thompson GB, Young WF, et al.: Pheochromocytomas and paragangliomas in von Hippel-Lindau disease: a role for laparoscopic and cortical-sparing surgery. Arch Surg 137 (6): 682-8; discussion 688-9, 2002.12049539
Brauckhoff M, Gimm O, Thanh PN, et al.: Critical size of residual adrenal tissue and recovery from impaired early postoperative adrenocortical function after subtotal bilateral adrenalectomy. Surgery 134 (6): 1020-7; discussion 1027-8, 2003.14668736
Walther MM, Keiser HR, Choyke PL, et al.: Management of hereditary pheochromocytoma in von Hippel-Lindau kindreds with partial adrenalectomy. J Urol 161 (2): 395-8, 1999.9915410
Fallon SC, Feig D, Lopez ME, et al.: The utility of cortical-sparing adrenalectomy in pheochromocytomas associated with genetic syndromes. J Pediatr Surg 48 (6): 1422-5, 2013.23845641
Roukounakis N, Dimas S, Kafetzis I, et al.: Is preservation of the adrenal vein mandatory in laparoscopic adrenal-sparing surgery? JSLS 11 (2): 215-8, 2007 Apr-Jun.17761083
Timmers HJ, Gimenez-Roqueplo AP, Mannelli M, et al.: Clinical aspects of SDHx-related pheochromocytoma and paraganglioma. Endocr Relat Cancer 16 (2): 391-400, 2009.19190077
Vargas HI, Kavoussi LR, Bartlett DL, et al.: Laparoscopic adrenalectomy: a new standard of care. Urology 49 (5): 673-8, 1997.9145969
Perrier ND, Kennamer DL, Bao R, et al.: Posterior retroperitoneoscopic adrenalectomy: preferred technique for removal of benign tumors and isolated metastases. Ann Surg 248 (4): 666-74, 2008.18936580
Dickson PV, Jimenez C, Chisholm GB, et al.: Posterior retroperitoneoscopic adrenalectomy: a contemporary American experience. J Am Coll Surg 212 (4): 659-65; discussion 665-7, 2011.21463807
Binderup ML, Bisgaard ML, Harbud V, et al.: Von Hippel-Lindau disease (vHL). National clinical guideline for diagnosis and surveillance in Denmark. 3rd edition. Dan Med J 60 (12): B4763, 2013.24355456
Kruizinga RC, Sluiter WJ, de Vries EG, et al.: Calculating optimal surveillance for detection of von Hippel-Lindau-related manifestations. Endocr Relat Cancer 21 (1): 63-71, 2014.24132471
Keutgen XM, Hammel P, Choyke PL, et al.: Evaluation and management of pancreatic lesions in patients with von Hippel-Lindau disease. Nat Rev Clin Oncol 13 (9): 537-49, 2016.27030075
Shell J, Tirosh A, Millo C, et al.: The utility of 68Gallium-DOTATATE PET/CT in the detection of von Hippel-Lindau disease associated tumors. Eur J Radiol 112: 130-135, 2019.30777201
Sadowski SM, Weisbrod AB, Ellis R, et al.: Prospective evaluation of the clinical utility of 18-fluorodeoxyglucose PET CT scanning in patients with von hippel-lindau-associated pancreatic lesions. J Am Coll Surg 218 (5): 997-1003, 2014.24661849
Blansfield JA, Choyke L, Morita SY, et al.: Clinical, genetic and radiographic analysis of 108 patients with von Hippel-Lindau disease (VHL) manifested by pancreatic neuroendocrine neoplasms (PNETs). Surgery 142 (6): 814-8; discussion 818.e1-2, 2007.18063061
Tirosh A, Sadowski SM, Linehan WM, et al.: Association of VHL Genotype With Pancreatic Neuroendocrine Tumor Phenotype in Patients With von Hippel-Lindau Disease. JAMA Oncol 4 (1): 124-126, 2018.29075773
Weisbrod AB, Kitano M, Thomas F, et al.: Assessment of tumor growth in pancreatic neuroendocrine tumors in von Hippel Lindau syndrome. J Am Coll Surg 218 (2): 163-9, 2014.24440063
Libutti SK, Choyke PL, Bartlett DL, et al.: Pancreatic neuroendocrine tumors associated with von Hippel Lindau disease: diagnostic and management recommendations. Surgery 124 (6): 1153-9, 1998.9854597
Krivosic V, Kamami-Levy C, Jacob J, et al.: Laser photocoagulation for peripheral retinal capillary hemangioblastoma in von Hippel-Lindau disease. Ophthalmol Retina 1 (1): 59-67, 2017. Also available online (https://www.sciencedirect.com/science/article/pii/S2468653016300227). Last accessed October 22, 2024.
Gaudric A, Krivosic V, Duguid G, et al.: Vitreoretinal surgery for severe retinal capillary hemangiomas in von hippel-lindau disease. Ophthalmology 118 (1): 142-9, 2011.20801520
Krzystolik K, Stopa M, Kuprjanowicz L, et al.: PARS PLANA VITRECTOMY IN ADVANCED CASES OF VON HIPPEL-LINDAU EYE DISEASE. Retina 36 (2): 325-34, 2016.26308528
Papastefanou VP, Pilli S, Stinghe A, et al.: Photodynamic therapy for retinal capillary hemangioma. Eye (Lond) 27 (3): 438-42, 2013.23288135
Sachdeva R, Dadgostar H, Kaiser PK, et al.: Verteporfin photodynamic therapy of six eyes with retinal capillary haemangioma. Acta Ophthalmol 88 (8): e334-40, 2010.20946329
Ach T, Thiemeyer D, Hoeh AE, et al.: Intravitreal bevacizumab for retinal capillary haemangioma: longterm results. Acta Ophthalmol 88 (4): e137-8, 2010.19681788
Slim E, Antoun J, Kourie HR, et al.: Intravitreal bevacizumab for retinal capillary hemangioblastoma: A case series and literature review. Can J Ophthalmol 49 (5): 450-7, 2014.25284102
Wong WT, Liang KJ, Hammel K, et al.: Intravitreal ranibizumab therapy for retinal capillary hemangioblastoma related to von Hippel-Lindau disease. Ophthalmology 115 (11): 1957-64, 2008.18789534
von Buelow M, Pape S, Hoerauf H: Systemic bevacizumab treatment of a juxtapapillary retinal haemangioma. Acta Ophthalmol Scand 85 (1): 114-6, 2007.17244223
Wackernagel W, Lackner EM, Pilz S, et al.: von Hippel-Lindau disease: treatment of retinal haemangioblastomas by targeted therapy with systemic bevacizumab. Acta Ophthalmol 88 (7): e271-2, 2010.20977691
Knickelbein JE, Jacobs-El N, Wong WT, et al.: Systemic Sunitinib Malate Treatment for Advanced Juxtapapillary Retinal Hemangioblastomas Associated with von Hippel-Lindau Disease. Ophthalmol Retina 1 (3): 181-187, 2017 May-Jun.28670632
Seibel I, Cordini D, Hager A, et al.: Long-term results after proton beam therapy for retinal papillary capillary hemangioma. Am J Ophthalmol 158 (2): 381-6, 2014.24844975
Byun J, Yoo HJ, Kim JH, et al.: Growth rate and fate of untreated hemangioblastomas: clinical assessment of the experience of a single institution. J Neurooncol 144 (1): 147-154, 2019.31201685
Lonser RR, Butman JA, Huntoon K, et al.: Prospective natural history study of central nervous system hemangioblastomas in von Hippel-Lindau disease. J Neurosurg 120 (5): 1055-62, 2014.24579662
Harati A, Satopää J, Mahler L, et al.: Early microsurgical treatment for spinal hemangioblastomas improves outcome in patients with von Hippel-Lindau disease. Surg Neurol Int 3: 6, 2012.22347675
Asthagiri AR, Mehta GU, Butman JA, et al.: Long-term stability after multilevel cervical laminectomy for spinal cord tumor resection in von Hippel-Lindau disease. J Neurosurg Spine 14 (4): 444-52, 2011.21275550
Das JM, Kesavapisharady K, Sadasivam S, et al.: Microsurgical Treatment of Sporadic and von Hippel-Lindau Disease Associated Spinal Hemangioblastomas: A Single-Institution Experience. Asian Spine J 11 (4): 548-555, 2017.28874972
Kano H, Shuto T, Iwai Y, et al.: Stereotactic radiosurgery for intracranial hemangioblastomas: a retrospective international outcome study. J Neurosurg 122 (6): 1469-78, 2015.25816088
Asthagiri AR, Mehta GU, Zach L, et al.: Prospective evaluation of radiosurgery for hemangioblastomas in von Hippel-Lindau disease. Neuro Oncol 12 (1): 80-6, 2010.20150370
Liebenow B, Tatter A, Dezarn WA, et al.: Gamma Knife Stereotactic Radiosurgery favorably changes the clinical course of hemangioblastoma growth in von Hippel-Lindau and sporadic patients. J Neurooncol 142 (3): 471-478, 2019.30729402
Tang JD, Grady AJ, Nickel CJ, et al.: Systematic Review of Endolymphatic Sac Tumor Treatment and Outcomes. Otolaryngol Head Neck Surg 168 (3): 282-290, 2023.35763364
Linehan WM, Pinto PA, Bratslavsky G, et al.: Hereditary kidney cancer: unique opportunity for disease-based therapy. Cancer 115 (10 Suppl): 2252-61, 2009.19402075
Shuch B: HIF2 Inhibition for von-Hippel Lindau Associated Kidney Cancer: Will Urology Lead or Follow? Urol Oncol 39 (5): 277-280, 2021.34297683
Jonasch E, McCutcheon IE, Waguespack SG, et al.: Pilot trial of sunitinib therapy in patients with von Hippel-Lindau disease. Ann Oncol 22 (12): 2661-6, 2011.22105611
Roma A, Maruzzo M, Basso U, et al.: First-Line sunitinib in patients with renal cell carcinoma (RCC) in von Hippel-Lindau (VHL) disease: clinical outcome and patterns of radiological response. Fam Cancer 14 (2): 309-16, 2015.25391617
Stamatakis L, Shuch B, Singer EA, et al.: Phase II trial of vandetanib in Von Hippel-Lindau-associated renal cell carcinoma. J Clin Oncol 31 (15 Suppl): 4584, 2013. Also available online (https://ascopubs.org/doi/10.1200/jco.2013.31.15_suppl.4584). Last accessed October 22, 2024.
Jonasch E, McCutcheon IE, Gombos DS, et al.: Pazopanib in patients with von Hippel-Lindau disease: a single-arm, single-centre, phase 2 trial. Lancet Oncol 19 (10): 1351-1359, 2018.30236511
Dahr SS, Cusick M, Rodriguez-Coleman H, et al.: Intravitreal anti-vascular endothelial growth factor therapy with pegaptanib for advanced von Hippel-Lindau disease of the retina. Retina 27 (2): 150-8, 2007.17290195
Kondo K, Kim WY, Lechpammer M, et al.: Inhibition of HIF2alpha is sufficient to suppress pVHL-defective tumor growth. PLoS Biol 1 (3): E83, 2003.14691554
Courtney KD, Infante JR, Lam ET, et al.: Phase I Dose-Escalation Trial of PT2385, a First-in-Class Hypoxia-Inducible Factor-2α Antagonist in Patients With Previously Treated Advanced Clear Cell Renal Cell Carcinoma. J Clin Oncol 36 (9): 867-874, 2018.29257710
Jonasch E, Donskov F, Iliopoulos O, et al.: Belzutifan for Renal Cell Carcinoma in von Hippel-Lindau Disease. N Engl J Med 385 (22): 2036-2046, 2021.34818478
Frantzen C, Kruizinga RC, van Asselt SJ, et al.: Pregnancy-related hemangioblastoma progression and complications in von Hippel-Lindau disease. Neurology 79 (8): 793-6, 2012.22875085
Ye DY, Bakhtian KD, Asthagiri AR, et al.: Effect of pregnancy on hemangioblastoma development and progression in von Hippel-Lindau disease. J Neurosurg 117 (5): 818-24, 2012.22937928

## Prognosis

Historically, patients with von Hippel-Lindau disease (VHL) had poor survival when compared with the general population, because of the morbidity and mortality of the various disease manifestations and the resultant management.[1] With improved understanding of the disease and modern management strategies, the outcomes may be improving. A Danish study comparing the life expectancy of individuals with VHL with that of their unaffected siblings demonstrated a median survival of 67 years in men and 60 years in women with VHL disease.[2] A second study from China involving 340 patients with VHL disease estimated a median life expectancy of 62 years.[3]

In the past, metastatic renal cell carcinoma (RCC) has caused about one-third of deaths in patients with VHL and, in some reports, it was the leading cause of death in VHL patients.[1,4-6] With increased surveillance of pathogenic variant–positive individuals, the RCC mortality rate is thought to have diminished significantly because of adherence to RCC treatment recommendations, including the 3-cm rule. The study from China demonstrated that 97% of deaths in patients with VHL were disease related, with central nervous system (CNS) hemangioblastoma and RCC accounting for 67.7% and 27.8% of deaths, respectively.[3] The Danish study demonstrated 79% of deaths were VHL related, with 51% attributed to CNS hemangioblastoma and 36% attributed to RCC.[2]

Morbidity and mortality in VHL vary and are influenced by the individual and the family’s VHL phenotype (e.g., type 1, 2A, 2B, or 2C). For more information, see the Genotype-phenotype correlations section. The Danish study reported an increased hazard ratio for death in women,[2] but this was not observed in the Chinese series.[3] The age and type of presentation may influence outcome, perhaps reflecting disease aggressiveness. Genotype did not have an effect on survival probability in the Danish series, but in the Chinese study, those with type 2 disease had improved survival (compared with type 1) and those with a missense variant had improved survival (compared with a truncating variant).

### References

Maher ER, Yates JR, Harries R, et al.: Clinical features and natural history of von Hippel-Lindau disease. Q J Med 77 (283): 1151-63, 1990.2274658
Binderup ML, Jensen AM, Budtz-Jørgensen E, et al.: Survival and causes of death in patients with von Hippel-Lindau disease. J Med Genet 54 (1): 11-18, 2017.27539272
Wang JY, Peng SH, Li T, et al.: Risk factors for survival in patients with von Hippel-Lindau disease. J Med Genet 55 (5): 322-328, 2018.29330336
Lamiell JM, Salazar FG, Hsia YE: von Hippel-Lindau disease affecting 43 members of a single kindred. Medicine (Baltimore) 68 (1): 1-29, 1989.2642584
Horton WA, Wong V, Eldridge R: Von Hippel-Lindau disease: clinical and pathological manifestations in nine families with 50 affected members. Arch Intern Med 136 (7): 769-77, 1976.945722
Neumann HP: Basic criteria for clinical diagnosis and genetic counselling in von Hippel-Lindau syndrome. Vasa 16 (3): 220-6, 1987.3310444

## Future Directions

Currently, the renal manifestations of von Hippel-Lindau disease (VHL) are generally managed surgically or with thermal ablation. There is a clear need for better management strategies and development of targeted systemic therapy. These will include defining the molecular biology and genetics of kidney cancer formation, which may lead to the development of effective prevention or early intervention therapies. In addition, the evolving understanding of the molecular biology of established kidney cancers may provide opportunities to phenotypically normalize the cancer by modulating residual VHL gene function, identifying new targets for treatment, and discovering synthetic lethal strategies that can effectively eradicate renal cell carcinoma.

## Latest Updates to This Summary (10/23/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Introduction

Added text to state that the significant burden of von Hippel-Lindau disease (VHL) leads to challenges, including high health care costs (cited Jonasch et al. as reference 6).

Genetics

Revised text to state that VHL pathogenic variants are highly penetrant, with manifestations found in nearly 100% of carriers by age 65 years (cited Zhang et al. as reference 9).

Genetic Risk Assessment for VHL

Added text about the results of a 2021 study that analyzed Alu-associated breakpoints in 71 families with germline VHL deletions (cited Vocke et al. as reference 6).

This summary is written and maintained by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the genetics of von Hippel-Lindau disease. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Von Hippel-Lindau Disease are:

- Alexandra Perez Lebensohn, MS, CGC (National Cancer Institute)
- Brian Matthew Shuch, MD (UCLA Health)
- Ramaprasad Srinivasan, MD, PhD (National Cancer Institute)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Cancer Genetics Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Cancer Genetics Editorial Board. PDQ Von Hippel-Lindau Disease. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/publications/pdq/information-summaries/genetics/vhl-syndrome-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 33724751]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).